# Bladder Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of bladder cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Bladder Cancer

### Incidence and Mortality

Bladder cancer is the sixth most common cancer in the United States after breast cancer, prostate cancer, lung cancer, colon cancer, and melanoma. It is the fourth most common cancer in men and the twelfth most common cancer in women. Of the approximately 84,000 new cases annually, about 65,000 are in men and about 19,000 are in women. Of the roughly 17,000 annual deaths, more than 12,000 are in men and fewer than 5,000 are in women. The reasons for this disparity between the sexes are not well understood.[1,2]

Estimated new cases and deaths from bladder cancer in the United States in 2025:[2]

- New cases: 84,870.
- Deaths: 17,420.

### Anatomy

The urinary tract consists of the kidneys, the ureters, the bladder, and the urethra. The urinary tract is lined with transitional cell urothelium from the renal pelvis to the proximal urethra. Transitional cell carcinoma (also known as urothelial carcinoma) can develop anywhere along this pathway.

Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).

### Histopathology

Under normal conditions, the bladder, the lower part of the kidneys (the renal pelvises), the ureters, and the proximal urethra are lined with a specialized mucous membrane referred to as transitional epithelium (also called urothelium). Most cancers that form in these tissues are transitional cell carcinomas (also called urothelial carcinomas) that derive from transitional epithelium. For more information, see Renal Cell Cancer Treatment and Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment.

Transitional cell carcinoma of the bladder can be low-grade or high-grade:

- Low-grade bladder cancer often recurs in the bladder after treatment but rarely invades the muscular wall of the bladder or spreads to other parts of the body. Patients rarely die of low-grade bladder cancer.
- High-grade bladder cancer commonly recurs in the bladder and has a strong tendency to invade the muscular wall of the bladder and spread to other parts of the body. High-grade bladder cancer is treated more aggressively than low-grade bladder cancer and is much more likely to cause death. Almost all deaths from bladder cancer result from high-grade disease.

Bladder cancer is also divided into muscle-invasive and nonmuscle-invasive disease, based on invasion of the muscularis propria (also known as the detrusor muscle), which is the thick muscle deep in the bladder wall.

- Muscle-invasive disease is much more likely to spread to other parts of the body and is generally treated by either removing the bladder or treating the bladder with radiation and chemotherapy. As noted above, high-grade cancers are much more likely to be muscle-invasive than low-grade cancers. Thus, muscle-invasive cancers are generally treated more aggressively than nonmuscle-invasive cancers.
- Nonmuscle-invasive disease can often be treated by removing the tumor(s) via a transurethral approach. Sometimes chemotherapy or other treatments are introduced into the bladder with a catheter to help fight the cancer.

Under conditions of chronic inflammation, such as infection of the bladder with the Schistosoma haematobium parasite, squamous metaplasia may occur in the bladder. The incidence of squamous cell carcinomas of the bladder is higher under conditions of chronic inflammation than is otherwise seen. In addition to transitional cell carcinomas and squamous cell carcinomas, adenocarcinomas, small cell carcinomas, and sarcomas can form in the bladder. In the United States, transitional cell carcinomas represent most (>90%) bladder cancers. However, a significant number of transitional cell carcinomas have areas of squamous cell or other differentiation.

### Carcinogenesis and Risk Factors

Increasing age is the most important risk factor for most cancers. Other risk factors for bladder cancer include:

- Use of tobacco, especially cigarettes.[3]
- Family history of bladder cancer.[4]
- Genetic variants.[5-7]
  - HRAS variant (Costello syndrome, facio-cutaneous-skeletal syndrome).
  - RB1 variant.
  - PTEN/MMAC1 variant (Cowden syndrome).
  - NAT2 slow acetylator phenotype.
  - GSTM1 null phenotype.
- Occupational exposure to chemicals in processed paint, dye, metal, and petroleum products that include:
  - Aluminum production (polycyclic aromatic hydrocarbons, fluorides).[3]
  - Aminobiphenyl and its metabolites.[3]
  - Aromatic amines, benzidine and its derivatives.[3]
  - Certain aldehydes.[8]
  - 2-Naphthylamine, beta-naphthylamine.[3]
  - o-Toluidine.[9]
- Treatment with cyclophosphamide, ifosfamide, or pelvic radiation for other malignancies.[10-12]
- Use of Chinese herbs: aristolochic acid extracted from species of Aristolochia fangchi.[13]
- Exposure to arsenic.
  - Arsenic in well water.[14,15 ,3]
  - Inorganic arsenic compounds (gallium arsenide).
- Exposure to chlorinated aliphatic hydrocarbons and chlorination by-products in treated water.[16]
- Schistosoma haematobium bladder infections (bilharzial bladder cancer).[17]
- Neurogenic bladder and associated use of indwelling catheters.[18]

There is strong evidence linking exposure to carcinogens to bladder cancer. The most common risk factor for bladder cancer in the United States is cigarette smoking. It is estimated that cigarette smoking causes up to one-half of all bladder cancers and that smoking increases a person’s risk of bladder cancer two to four times above baseline risk.[19,20] Smokers with less functional polymorphisms of N-acetyltransferase-2 (known as slow acetylators) have a higher risk of bladder cancer than other smokers, presumably because of their reduced ability to detoxify carcinogens.

Certain occupational exposures have also been linked to bladder cancer, and higher rates of bladder cancer have been reported in textile dye and rubber tire industries; among painters; leather workers; shoemakers; and aluminum-, iron-, and steelworkers. Specific chemicals linked to bladder carcinogenesis include beta-naphthylamine, 4-aminobiphenyl, and benzidine. Although these chemicals are now generally banned in Western countries, many other chemicals still in use are also suspected of causing bladder cancer.[20]

Exposure to the chemotherapy drug cyclophosphamide has also been associated with an increased risk of bladder cancer.

Chronic urinary tract infections and infection with the parasite S. haematobium have also been associated with an increased risk of bladder cancer, often squamous cell carcinomas. Chronic inflammation is thought to play a key role in carcinogenesis in these settings.

### Clinical Features

Bladder cancer typically presents with gross or microscopic hematuria. Less commonly, patients may complain of urinary frequency, nocturia, and dysuria, symptoms that are more common in patients with carcinoma in situ. Patients with upper urinary tract urothelial carcinomas may present with pain resulting from obstruction by the tumor.

Urothelial carcinomas are often multifocal—the entire urothelium needs to be evaluated if a tumor is found. In patients with bladder cancer, upper urinary tract imaging is essential for staging and surveillance. This can be accomplished with ureteroscopy, retrograde pyelograms during cystoscopy, intravenous pyelograms, or computed tomography (CT) urograms. Similarly, patients with an upper urinary tract transitional cell carcinoma have a high risk of developing bladder cancer; these patients need periodic cystoscopy and surveillance of the contralateral upper urinary tract.

### Diagnostics

When bladder cancer is suspected, the most useful diagnostic test is cystoscopy. Radiological studies such as CT scans or ultrasound do not have sufficient sensitivity to detect bladder cancers. Cystoscopy can be performed in a urology clinic.

If cancer is seen on cystoscopy, the patient is typically scheduled for bimanual examination under anesthesia and a repeat cystoscopy in an operating room so that transurethral resection of the tumor(s) and/or biopsies can be performed. If a high-grade cancer (including carcinoma in situ) or invasive cancer is seen, the patient is staged with a CT scan of the abdomen and pelvis (or CT urogram) and either a chest x-ray or chest CT scan. Patients with a nonhepatic elevation of alkaline phosphatase or symptoms suggestive of bone metastases undergo a bone scan.

### Prognostic Factors

The major prognostic factors in carcinoma of the bladder include:

- Depth of invasion into the bladder wall.
- Pathological grade of the tumor.
- Presence versus absence of carcinoma in situ.

Among nonmuscle-invasive cancers, the following factors are also prognostic:[21]

- Number of tumors.
- Tumor size (e.g., >3 cm or <3 cm).
- Invasion of the lamina propria (Ta vs. T1).
- Whether the tumor is the primary tumor or a recurrence.

Most superficial tumors are well differentiated. Patients in whom superficial tumors are less differentiated, large, multiple, or associated with carcinoma in situ (Tis) in other areas of the bladder mucosa are at greatest risk of recurrence and the development of invasive cancer. These patients may be considered to have the entire urothelial surface at risk of cancer development.

### Survival

Patients who die of bladder cancer almost always have disease that has metastasized from the bladder to other organs. Low-grade bladder cancers rarely grow into the muscular wall of the bladder and rarely metastasize, so patients with low-grade (grade I) bladder cancers rarely die of their cancer. Nonetheless, they may experience multiple relapses that need to be resected.

Almost all deaths from bladder cancer are among patients with high-grade disease, which has a much greater potential to invade deeply into the bladder’s muscular wall and spread to other organs.

Approximately 70% to 80% of patients with newly diagnosed bladder cancer present with superficial bladder tumors (i.e., stage Ta, Tis, or T1). The prognosis of these patients depends largely on the grade of the tumor. Patients with high-grade tumors have a significant risk of dying of their cancer, even if it is not muscle-invasive.[22] Among patients with high-grade tumors, those who present with superficial, nonmuscle-invasive bladder cancer can usually be cured, and those with muscle-invasive disease can sometimes be cured.[23-25] Studies have demonstrated that some patients with distant metastases have achieved long-term complete response after being treated with combination chemotherapy regimens, although most such patients have metastases limited to their lymph nodes and have a near-normal performance status.[26,27]

There are clinical trials suitable for patients with all stages of bladder cancer. Whenever possible, patients should consider clinical trials designed to improve upon standard therapy.

General information about clinical trials is also available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-Up

Bladder cancer tends to recur, even when it is noninvasive at the time of diagnosis. Therefore, standard practice is to perform surveillance of the urinary tract after a diagnosis of bladder cancer. However, no trials have been conducted to assess whether surveillance affects rates of progression, survival, or quality of life. In addition, clinical trials have not defined an optimal surveillance schedule. Urothelial carcinomas are thought to reflect a so-called field defect, whereby the cancer emerges because of genetic variants that are widely present in the patient's bladder or entire urothelium. Thus, people who have had a bladder tumor resected often subsequently have recurrent tumors in the bladder, often in different locations from the site of the initial tumor. Similarly, but less commonly, they may have tumors appear in the upper urinary tract (i.e., in the renal pelvises or ureters).

An alternative explanation for these patterns of recurrence is that cancer cells that are disrupted when a tumor is resected may reimplant elsewhere in the urothelium. Support for this second theory is that tumors are more likely to recur downstream than upstream from the initial cancer. Upper urinary tract cancers are more likely to recur in the bladder than bladder cancers are to recur in the upper urinary tract.[28-31]

### References

National Cancer Institute: SEER Cancer Stat Facts: Bladder Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/urinb.html). Last accessed January 31, 2025.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Burger M, Catto JW, Dalbagni G, et al.: Epidemiology and risk factors of urothelial bladder cancer. Eur Urol 63 (2): 234-41, 2013.22877502
Fraumeni JF Jr, Thomas LB: Malignant bladder tumors in a man and his three sons. JAMA 201 (7): 97-9, 1967.
Marees T, Moll AC, Imhof SM, et al.: Risk of second malignancies in survivors of retinoblastoma: more than 40 years of follow-up. J Natl Cancer Inst 100 (24): 1771-9, 2008.19066271
Gallagher DJ, Feifer A, Coleman JA: Genitourinary cancer predisposition syndromes. Hematol Oncol Clin North Am 24 (5): 861-83, 2010.20816578
Lindor NM, McMaster ML, Lindor CJ, et al.: Concise handbook of familial cancer susceptibility syndromes - second edition. J Natl Cancer Inst Monogr (38): 1-93, 2008.18559331
Stadler WM: Molecular events in the initiation and progression of bladder cancer (review). Int J Oncol 3: 549-557, 1993.
Brown T, Slack R, Rushton L, et al.: Occupational cancer in Britain. Urinary tract cancers: bladder and kidney. Br J Cancer 107 (Suppl 1): S76-84, 2012.22710682
Nieder AM, Porter MP, Soloway MS: Radiation therapy for prostate cancer increases subsequent risk of bladder and rectal cancer: a population based cohort study. J Urol 180 (5): 2005-9; discussion 2009-10, 2008.18801517
Abern MR, Dude AM, Tsivian M, et al.: The characteristics of bladder cancer after radiotherapy for prostate cancer. Urol Oncol 31 (8): 1628-34, 2013.22575239
Monach PA, Arnold LM, Merkel PA: Incidence and prevention of bladder toxicity from cyclophosphamide in the treatment of rheumatic diseases: a data-driven review. Arthritis Rheum 62 (1): 9-21, 2010.20039416
Cosyns JP: Aristolochic acid and 'Chinese herbs nephropathy': a review of the evidence to date. Drug Saf 26 (1): 33-48, 2003.12495362
Letašiová S, Medve'ová A, Šovčíková A, et al.: Bladder cancer, a review of the environmental risk factors. Environ Health 11 (Suppl 1): S11, 2012.22759493
Fernández MI, López JF, Vivaldi B, et al.: Long-term impact of arsenic in drinking water on bladder cancer health care and mortality rates 20 years after end of exposure. J Urol 187 (3): 856-61, 2012.22248521
Villanueva CM, Cantor KP, Grimalt JO, et al.: Bladder cancer and exposure to water disinfection by-products through ingestion, bathing, showering, and swimming in pools. Am J Epidemiol 165 (2): 148-56, 2007.17079692
Kantor AF, Hartge P, Hoover RN, et al.: Urinary tract infection and risk of bladder cancer. Am J Epidemiol 119 (4): 510-5, 1984.6711540 84175934
Locke JR, Hill DE, Walzer Y: Incidence of squamous cell carcinoma in patients with long-term catheter drainage. J Urol 133 (6): 1034-5, 1985.3999203 85211064
Brennan P, Bogillot O, Greiser E, et al.: The contribution of cigarette smoking to bladder cancer in women (pooled European data). Cancer Causes Control 12 (5): 411-7, 2001.11545456
Kirkali Z, Chan T, Manoharan M, et al.: Bladder cancer: epidemiology, staging and grading, and diagnosis. Urology 66 (6 Suppl 1): 4-34, 2005.16399414
Sylvester RJ, van der Meijden AP, Oosterlinck W, et al.: Predicting recurrence and progression in individual patients with stage Ta T1 bladder cancer using EORTC risk tables: a combined analysis of 2596 patients from seven EORTC trials. Eur Urol 49 (3): 466-5; discussion 475-7, 2006.16442208
Herr HW: Tumor progression and survival of patients with high grade, noninvasive papillary (TaG3) bladder tumors: 15-year outcome. J Urol 163 (1): 60-1; discussion 61-2, 2000.10604314
Stein JP, Lieskovsky G, Cote R, et al.: Radical cystectomy in the treatment of invasive bladder cancer: long-term results in 1,054 patients. J Clin Oncol 19 (3): 666-75, 2001.11157016
Madersbacher S, Hochreiter W, Burkhard F, et al.: Radical cystectomy for bladder cancer today--a homogeneous series without neoadjuvant therapy. J Clin Oncol 21 (4): 690-6, 2003.12586807
Manoharan M, Ayyathurai R, Soloway MS: Radical cystectomy for urothelial carcinoma of the bladder: an analysis of perioperative and survival outcome. BJU Int 104 (9): 1227-32, 2009.19519764
Loehrer PJ, Einhorn LH, Elson PJ, et al.: A randomized comparison of cisplatin alone or in combination with methotrexate, vinblastine, and doxorubicin in patients with metastatic urothelial carcinoma: a cooperative group study. J Clin Oncol 10 (7): 1066-73, 1992.1607913 92300408
von der Maase H, Sengelov L, Roberts JT, et al.: Long-term survival results of a randomized trial comparing gemcitabine plus cisplatin, with methotrexate, vinblastine, doxorubicin, plus cisplatin in patients with bladder cancer. J Clin Oncol 23 (21): 4602-8, 2005.16034041
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Primary superficial bladder cancer risk groups according to progression, mortality and recurrence. J Urol 164 (3 Pt 1): 680-4, 2000.10954628
Nieder AM, Brausi M, Lamm D, et al.: Management of stage T1 tumors of the bladder: International Consensus Panel. Urology 66 (6 Suppl 1): 108-25, 2005.16399419
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder. Eur Urol 54 (2): 303-14, 2008.18468779
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder, the 2011 update. Eur Urol 59 (6): 997-1008, 2011.21458150

## Cellular Classification of Bladder Cancer

More than 90% of bladder cancers are transitional cell carcinomas derived from the uroepithelium. About 2% to 7% are squamous cell carcinomas, and 2% are adenocarcinomas.[1] Adenocarcinomas may be of urachal origin or nonurachal origin; the latter type is generally thought to arise from metaplasia of chronically irritated transitional epithelium. Small cell carcinomas also may develop in the bladder.[2,3] Sarcomas of the bladder are very rare.

Pathological grade of transitional cell carcinomas, which is based on cellular atypia, nuclear abnormalities, and the number of mitotic figures, is of great prognostic importance.

### References

Al-Ahmadie H, Lin O, Reuter VE: Pathology and cytology of tumors of the urinary tract. In: Scardino PT, Linehan WM, Zelefsky MJ, et al., eds.: Comprehensive Textbook of Genitourinary Oncology. 4th ed. Lippincott Williams & Wilkins, 2011, pp 295-316.
Koay EJ, Teh BS, Paulino AC, et al.: A Surveillance, Epidemiology, and End Results analysis of small cell carcinoma of the bladder: epidemiology, prognostic variables, and treatment trends. Cancer 117 (23): 5325-33, 2011.21567387
Fahed E, Hansel DE, Raghavan D, et al.: Small cell bladder cancer: biology and management. Semin Oncol 39 (5): 615-8, 2012.23040258

## Stage Information for Bladder Cancer

The clinical staging of carcinoma of the bladder is determined by the depth of invasion of the bladder wall by the tumor. This determination requires a cystoscopic examination that includes a biopsy and examination under anesthesia to assess the following:

- Size and mobility of palpable masses.
- Degree of induration of the bladder wall.
- Presence of extravesical extension or invasion of adjacent organs.

Clinical staging, even when computed tomography (CT) and/or magnetic resonance imaging (MRI) scans and other imaging modalities are used, often underestimates the extent of tumor, particularly in cancers that are less differentiated and more deeply invasive. CT imaging is the standard staging modality. A clinical benefit from obtaining MRI or positron emission tomography scans instead of CT imaging has not been demonstrated.[1,2]

### AJCC Stage Groupings and TNM Definitions

The American Joint Committee on Cancer (AJCC) has designated staging by TNM (tumor, node, metastasis) classification to define bladder cancer.[3]

Table 1. Definitions of TNM Stages 0 and 0is^a^

Stage | TNM | Description | Illustration
0a | Ta, N0, M0 | Ta = Noninvasive papillary carcinoma. | Stage 0 bladder cancer (noninvasive bladder cancer); drawing shows the bladder, lumen (the space where urine collects), ureter, prostate, and urethra. The first inset shows stage 0a (also called noninvasive papillary carcinoma) on the inner lining of the bladder. The second inset shows stage 0is (also called carcinoma in situ) on the inner lining of the bladder. Also shown are the connective tissue and muscle layers of the bladder and the layer of fat around the bladder.
0a | Ta, N0, M0 | N0 = No lymph node metastasis.
0a | Ta, N0, M0 | M0 = No distant metastasis.
0is | Tis, N0, M0 | Tis = Urothelial carcinoma in situ: flat tumor.
0is | Tis, N0, M0 | N0 = No lymph node metastasis.
0is | Tis, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

Table 2. Definition of TNM Stage I^a^

Stage | TNM | Description | Illustration
I | T1, N0, M0 | T1 = Tumor invades lamina propria (subepithelial connective tissue). | Stage I bladder cancer (non-muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue next to it. Also shown are the muscle layers of the bladder and the layer of fat around the bladder.
I | T1, N0, M0 | N0 = No lymph node metastasis
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

Table 3. Definition of TNM Stage II^a^

Stage | TNM | Description | | Illustration
II | T2a, N0, M0 | pT2a = Tumor invades superficial muscularis propria (inner half). | | Stage II bladder cancer (muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue and the muscle layers of the bladder. Also shown is the layer of fat around the bladder.
II | T2a, N0, M0 | N0 = No lymph node metastasis.
II | T2a, N0, M0 | M0 = No distant metastasis.
II | T2b, N0, M0 | pT2b = Tumor invades deep muscularis propria (outer half).
II | T2b, N0, M0 | N0 = No lymph node metastasis.
II | T2b, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

Table 4. Definition of TNM Stage III^a^

Stage | TNM | Description | Illustration
IIIA | T3a, T3b, T4a, N0, M0 | –pT3a = Microscopically. | Two-panel drawing showing stage IIIA bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) the layer of fat around the bladder and (b) one lymph node in the pelvis. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (right panel).
IIIA | T3a, T3b, T4a, N0, M0 | –pT3b = Macroscopically (extravesical mass).
IIIA | T3a, T3b, T4a, N0, M0 | –T4a = Extravesical tumor invades directly into prostatic stroma, uterus, vagina.
IIIA | T3a, T3b, T4a, N0, M0 | N0 = No lymph node metastasis.
IIIA | T3a, T3b, T4a, N0, M0 | M0 = No distant metastasis.
IIIA | T1–T4a, N1, M0 | T1 = Tumor invades lamina propria (subepithelial connective tissue).
IIIA | T1–T4a, N1, M0 | T2 = Tumor invades muscularis propria.
IIIA | T1–T4a, N1, M0 | –pT2a = Tumor invades superficial muscularis propria (inner half).
IIIA | T1–T4a, N1, M0 | –pT2b = Tumor invades deep muscularis propria (outer half).
IIIA | T1–T4a, N1, M0 | T3 = Tumor invades perivesical soft tissue.
IIIA | T1–T4a, N1, M0 | –pT3a = Microscopically.
IIIA | T1–T4a, N1, M0 | –pT3b = Macroscopically (extravesical mass).
IIIA | T1–T4a, N1, M0 | T4 = Extravesical tumor directly invades any of the following: prostatic stroma, seminal vesicles, uterus, vagina, pelvic wall, abdominal wall.
IIIA | T1–T4a, N1, M0 | –T4a = Extravesical tumor invades directly into prostatic stroma, uterus, vagina.
IIIA | T1–T4a, N1, M0 | N1 = Single regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node).
IIIA | T1–T4a, N1, M0 | M0 = No distant metastasis.
IIIB | T1–4a, N2, N3, M0 | T1 = Tumor invades lamina propria (subepithelial connective tissue). | Two-panel drawing showing stage IIIB bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) more than one lymph node in the pelvis that is not near the common iliac artery and (b) one lymph node near the common iliac artery. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (the right panel).
IIIB | T1–4a, N2, N3, M0 | T2 = Tumor invades muscularis propria.
IIIB | T1–4a, N2, N3, M0 | –pT2a = Tumor invades superficial muscularis propria (inner half).
IIIB | T1–4a, N2, N3, M0 | –pT2b = Tumor invades deep muscularis propria (outer half).
IIIB | T1–4a, N2, N3, M0 | T3 = Tumor invades perivesical soft tissue.
IIIB | T1–4a, N2, N3, M0 | –pT3a = Microscopically.
IIIB | T1–4a, N2, N3, M0 | pT3b = Macroscopically (extravesical mass).
IIIB | T1–4a, N2, N3, M0 | T4 = Extravesical tumor directly invades any of the following: prostatic stroma, seminal vesicles, uterus, vagina, pelvic wall, abdominal wall.
IIIB | T1–4a, N2, N3, M0 | –T4a = Extravesical tumor invades directly into prostatic stroma, uterus, vagina.
IIIB | T1–4a, N2, N3, M0 | N2 = Multiple regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node metastasis).
IIIB | T1–4a, N2, N3, M0 | N3 = Lymph node metastasis to the common iliac lymph nodes.
IIIB | T1–4a, N2, N3, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

Table 5. Definition of TNM Stage IV^a^

Stage | TNM | Description | Illustration
IVA | T4b, N0, M0 | –T4b = Extravesical tumor invades pelvic wall, abdominal wall. | Stage IVA and IVB bladder cancer; drawing shows cancer that has spread from the bladder to (a) the abdominal or pelvic wall and (b) lymph nodes above the common iliac arteries. Also shown is cancer that has spread to (c) other parts of the body, including the lung, liver, and bone.
IVA | T4b, N0, M0 | N0 = No lymph node metastasis.
IVA | T4b, N0, M0 | M0 = No distant metastasis.
IVA | Any T, Any N, M1a | TX = Primary tumor cannot be assessed.
IVA | Any T, Any N, M1a | T0 = No evidence of primary tumor.
IVA | Any T, Any N, M1a | –Ta = Noninvasive papillary carcinoma.
IVA | Any T, Any N, M1a | Tis = Urothelial carcinoma in situ: flat tumor.
IVA | Any T, Any N, M1a | T1 = Tumor invades lamina propria (subepithelial connective tissue).
IVA | Any T, Any N, M1a | T2 = Tumor invades muscularis propria.
IVA | Any T, Any N, M1a | –pT2a = Tumor invades superficial muscularis propria (inner half).
IVA | Any T, Any N, M1a | –pT2b = Tumor invades deep muscularis propria (outer half).
IVA | Any T, Any N, M1a | T3 = Tumor invades perivesical soft tissue.
IVA | Any T, Any N, M1a | –pT3a = Microscopically.
IVA | Any T, Any N, M1a | –pT3b = Macroscopically (extravesical mass).
IVA | Any T, Any N, M1a | T4 = Extravesical tumor directly invades any of the following: prostatic stroma, seminal vesicles, uterus, vagina, pelvic wall, abdominal wall.
IVA | Any T, Any N, M1a | –T4a = Extravesical tumor invades directly into prostatic stroma, uterus, vagina.
IVA | Any T, Any N, M1a | –T4b = Extravesical tumor invades pelvic wall, abdominal wall.
IVA | Any T, Any N, M1a | NX = Lymph nodes cannot be assessed.
IVA | Any T, Any N, M1a | N0 = No lymph node metastasis.
IVA | Any T, Any N, M1a | N1 = Single regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node).
IVA | Any T, Any N, M1a | N2 = Multiple regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node metastasis).
IVA | Any T, Any N, M1a | N3 = Lymph node metastasis to the common iliac lymph nodes.
IVA | Any T, Any N, M1a | M0 = No distant metastasis.
IVA | Any T, Any N, M1a | –M1a = Distant metastasis limited to lymph nodes beyond the common iliacs.
IVB | Any T, Any N, M1b | TX = Primary tumor cannot be assessed.
IVB | Any T, Any N, M1b | T0 = No evidence of primary tumor.
IVB | Any T, Any N, M1b | –Ta = Noninvasive papillary carcinoma.
IVB | Any T, Any N, M1b | Tis = Urothelial carcinoma in situ: flat tumor.
IVB | Any T, Any N, M1b | T1 = Tumor invades lamina propria (subepithelial connective tissue).
IVB | Any T, Any N, M1b | T2 = Tumor invades muscularis propria.
IVB | Any T, Any N, M1b | –pT2a = Tumor invades superficial muscularis propria (inner half).
IVB | Any T, Any N, M1b | –pT2b = Tumor invades deep muscularis propria (outer half).
IVB | Any T, Any N, M1b | T3 = Tumor invades perivesical soft tissue.
IVB | Any T, Any N, M1b | –pT3a = Microscopically.
IVB | Any T, Any N, M1b | –pT3b = Macroscopically (extravesical mass).
IVB | Any T, Any N, M1b | T4 = Extravesical tumor directly invades any of the following: prostatic stroma, seminal vesicles, uterus, vagina, pelvic wall, abdominal wall.
IVB | Any T, Any N, M1b | –T4a = Extravesical tumor invades directly into prostatic stroma, uterus, vagina.
IVB | Any T, Any N, M1b | –T4b = Extravesical tumor invades pelvic wall, abdominal wall.
IVB | Any T, Any N, M1b | NX = Lymph nodes cannot be assessed.
IVB | Any T, Any N, M1b | N0 = No lymph node metastasis.
IVB | Any T, Any N, M1b | N1 = Single regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node).
IVB | Any T, Any N, M1b | N2 = Multiple regional lymph node metastasis in the true pelvis (perivesical, obturator, internal and external iliac, or sacral lymph node metastasis).
IVB | Any T, Any N, M1b | N3 = Lymph node metastasis to the common iliac lymph nodes.
IVB | Any T, Any N, M1b | M1b = Non-lymph node distant metastases.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

For urothelial histologies, a low- and high-grade designation is used to match the current World Health Organization/International Society of Urologic Pathology recommended grading system.[3]

For squamous cell carcinoma and adenocarcinoma, the grading schema in Table 6 is recommended.[3]

Table 6. Histological Grade (G)^a^

G | G Definition
GX | Grade cannot be assessed.
G1 | Well differentiated.
G2 | Moderately differentiated.
G3 | Poorly differentiated.

^a^Reprinted with permission from AJCC: Urinary bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 757–65.

### References

Cowan NC, Crew JP: Imaging bladder cancer. Curr Opin Urol 20 (5): 409-13, 2010.20625298
Green DA, Durand M, Gumpeni N, et al.: Role of magnetic resonance imaging in bladder cancer: current status and emerging techniques. BJU Int 110 (10): 1463-70, 2012.22500557
Bochner BH, Hansel DE, Efstathiou JA, et al.: Urinary Bladder. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 757-65.

## Treatment Option Overview for Bladder Cancer

### Nonmuscle-Invasive Bladder Cancer

Treatment of nonmuscle-invasive bladder cancers (Ta, Tis, T1) is based on risk stratification. Essentially all patients are initially treated with transurethral resection (TUR) of the bladder tumor, followed by a single immediate instillation of intravesical chemotherapy (mitomycin is typically used in the United States).[1-7]

Subsequent therapy is based on risk and typically consists of one of the following:[6-9]

- Surveillance for relapse or recurrence (typically used for tumors with low risk of recurrence or progression).
- A minimum of 1 year of intravesical treatments with bacillus Calmette-Guérin (BCG) plus surveillance for relapse (typically used for tumors at intermediate or high risk of progression to muscle-invasive disease).
- Additional intravesical chemotherapy (typically used for tumors with a high risk of recurrence but low risk of progression to muscle-invasive disease).

### Muscle-Invasive Bladder Cancer

Standard treatment for patients with muscle-invasive bladder cancers whose goal is cure is either neoadjuvant multiagent cisplatin–based chemotherapy followed by radical cystectomy and urinary diversion or radiation therapy with concomitant chemotherapy.[10-13] Other treatment approaches include:

- Radical cystectomy followed by multiagent cisplatin–based chemotherapy.
- Radical cystectomy without perioperative chemotherapy.[14-16]
- Radiation therapy without concomitant chemotherapy.[17]
- Partial cystectomy with or without perioperative chemotherapy.[18]

Many patients newly diagnosed with bladder cancer are candidates for participation in clinical trials.

Reconstructive techniques that fashion low-pressure storage reservoirs from the reconfigured small and large bowel eliminate the need for external drainage devices and, in many patients, allow voiding per urethra. These techniques are designed to improve the quality of life for patients who require cystectomy.[19]

Table 7. Treatment Options for Bladder Cancer

Stage (TNM Staging Criteria) | | Treatment Options
Stage 0 Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy
Stage 0 Bladder Cancer | | TUR with fulguration
Stage 0 Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of BCG
Stage 0 Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by intravesical chemotherapy
Stage 0 Bladder Cancer | | Segmental cystectomy (rarely indicated)
Stage 0 Bladder Cancer | | Radical cystectomy (in rare, highly selected patients with extensive or refractory superficial high-grade tumors)
Stage I Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy
Stage I Bladder Cancer | | TUR with fulguration
Stage I Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of BCG
Stage I Bladder Cancer | | TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by intravesical chemotherapy
Stage I Bladder Cancer | | Segmental cystectomy (rarely indicated)
Stage I Bladder Cancer | | Radical cystectomy in selected patients with extensive or refractory superficial tumors
Stages II and III Bladder Cancer | | Radical cystectomy
Stages II and III Bladder Cancer | | Neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy
Stages II and III Bladder Cancer | | Neoadjuvant combination chemotherapy followed by radical cystectomy
Stages II and III Bladder Cancer | | Radical cystectomy followed by adjuvant chemotherapy or immunotherapy
Stages II and III Bladder Cancer | | EBRT with or without concomitant chemotherapy
Stages II and III Bladder Cancer | | Segmental cystectomy (in selected patients)
Stages II and III Bladder Cancer | | TUR with fulguration (in selected patients)
Stage IV Bladder Cancer | T4b, N0, M0 | Enfortumab vedotin plus pembrolizumab
Stage IV Bladder Cancer | T4b, N0, M0 | Chemotherapy plus immunotherapy
Stage IV Bladder Cancer | T4b, N0, M0 | Chemotherapy alone
Stage IV Bladder Cancer | T4b, N0, M0 | Systemic therapy followed by radical cystectomy
Stage IV Bladder Cancer | T4b, N0, M0 | EBRT with or without concomitant chemotherapy
Stage IV Bladder Cancer | T4b, N0, M0 | Urinary diversion or cystectomy for palliation
Stage IV Bladder Cancer | Any T, any N, M1 | Enfortumab vedotin plus pembrolizumab
Stage IV Bladder Cancer | Any T, any N, M1 | Chemotherapy plus immunotherapy
Stage IV Bladder Cancer | Any T, any N, M1 | Chemotherapy alone or as an adjunct to local treatment
Stage IV Bladder Cancer | Any T, any N, M1 | Immunotherapy
Stage IV Bladder Cancer | Any T, any N, M1 | EBRT for palliation
Stage IV Bladder Cancer | Any T, any N, M1 | Urinary diversion or cystectomy for palliation
Stage IV Bladder Cancer | Any T, any N, M1 | Other chemotherapy agents with activity in metastatic bladder cancer, such as paclitaxel, docetaxel, ifosfamide, gallium nitrate, and pemetrexed (under clinical evaluation)
Stage IV Bladder Cancer | Any T, any N, M1 | Clinical trials
Recurrent Bladder Cancer | | Combination chemotherapy
Recurrent Bladder Cancer | | Immunotherapy
Recurrent Bladder Cancer | | Targeted therapy
Recurrent Bladder Cancer | | Surgery for new superficial or localized tumors
Recurrent Bladder Cancer | | Palliative therapy
Recurrent Bladder Cancer | | Clinical trials

BCG = bacillus Calmette-Guérin; EBRT = external-beam radiation therapy; TNM = T, size of tumor and any spread of cancer into nearby tissue; N, spread of cancer to nearby lymph nodes; M, metastasis or spread of cancer to other parts of body; TUR = transurethral resection.

### Fluorouracil Dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[20,21] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[20-22] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[23-25] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[26] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[27]

### References

Sylvester RJ, Oosterlinck W, van der Meijden AP: A single immediate postoperative instillation of chemotherapy decreases the risk of recurrence in patients with stage Ta T1 bladder cancer: a meta-analysis of published results of randomized clinical trials. J Urol 171 (6 Pt 1): 2186-90, quiz 2435, 2004.15126782
Mariappan P, Smith G: A surveillance schedule for G1Ta bladder cancer allowing efficient use of check cystoscopy and safe discharge at 5 years based on a 25-year prospective database. J Urol 173 (4): 1108-11, 2005.15758711
Nieder AM, Brausi M, Lamm D, et al.: Management of stage T1 tumors of the bladder: International Consensus Panel. Urology 66 (6 Suppl 1): 108-25, 2005.16399419
Oosterlinck W, Solsona E, Akaza H, et al.: Low-grade Ta (noninvasive) urothelial carcinoma of the bladder. Urology 66 (6 Suppl 1): 75-89, 2005.16399417
Sylvester RJ, van der Meijden A, Witjes JA, et al.: High-grade Ta urothelial carcinoma and carcinoma in situ of the bladder. Urology 66 (6 Suppl 1): 90-107, 2005.16399418
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder. Eur Urol 54 (2): 303-14, 2008.18468779
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder, the 2011 update. Eur Urol 59 (6): 997-1008, 2011.21458150
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Upper urinary tract tumors after primary superficial bladder tumors: prognostic factors and risk groups. J Urol 164 (4): 1183-7, 2000.10992362
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Multivariate analysis of the prognostic factors of primary superficial bladder cancer. J Urol 163 (1): 73-8, 2000.10604317
Sauer R, Birkenhake S, Kühn R, et al.: Efficacy of radiochemotherapy with platin derivatives compared to radiotherapy alone in organ-sparing treatment of bladder cancer. Int J Radiat Oncol Biol Phys 40 (1): 121-7, 1998.9422567 98083030
Advanced Bladder Cancer Meta-analysis Collaboration: Neoadjuvant chemotherapy in invasive bladder cancer: a systematic review and meta-analysis. Lancet 361 (9373): 1927-34, 2003.12801735 22686870
Winquist E, Kirchner TS, Segal R, et al.: Neoadjuvant chemotherapy for transitional cell carcinoma of the bladder: a systematic review and meta-analysis. J Urol 171 (2 Pt 1): 561-9, 2004.14713760
James ND, Hussain SA, Hall E, et al.: Radiotherapy with or without chemotherapy in muscle-invasive bladder cancer. N Engl J Med 366 (16): 1477-88, 2012.22512481
Madersbacher S, Hochreiter W, Burkhard F, et al.: Radical cystectomy for bladder cancer today--a homogeneous series without neoadjuvant therapy. J Clin Oncol 21 (4): 690-6, 2003.12586807
Stein JP, Dunn MD, Quek ML, et al.: The orthotopic T pouch ileal neobladder: experience with 209 patients. J Urol 172 (2): 584-7, 2004.15247737
Manoharan M, Ayyathurai R, Soloway MS: Radical cystectomy for urothelial carcinoma of the bladder: an analysis of perioperative and survival outcome. BJU Int 104 (9): 1227-32, 2009.19519764
Widmark A, Flodgren P, Damber JE, et al.: A systematic overview of radiation therapy effects in urinary bladder cancer. Acta Oncol 42 (5-6): 567-81, 2003.14596515
Holzbeierlein JM, Lopez-Corona E, Bochner BH, et al.: Partial cystectomy: a contemporary review of the Memorial Sloan-Kettering Cancer Center experience and recommendations for patient selection. J Urol 172 (3): 878-81, 2004.15310988
Hautmann RE, Miller K, Steiner U, et al.: The ileal neobladder: 6 years of experience with more than 200 patients. J Urol 150 (1): 40-5, 1993.8510272 93287328
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Treatment of Stage 0 Bladder Cancer

### Treatment Options for Stage 0 Bladder Cancer

Patients with stage 0 bladder tumors can be cured by a variety of treatments, even though the tendency for new tumor formation is high. In a series of patients with Ta or T1 tumors who were followed for a minimum of 20 years or until death, the risk of bladder cancer recurrence after initial resection was 80%.[1] Of greater concern than recurrence is the risk of progression to muscle-invasive, locally-advanced, or metastatic bladder cancer. While progression is rare for patients with low-grade tumors, it is common among patients with high-grade cancers.

One series of 125 patients with TaG3 cancers followed for 15 to 20 years reported that 39% progressed to more advanced-stage disease while 26% died of urothelial cancer. In comparison, among 23 patients with TaG1 tumors, none died and 5% progressed.[2] Risk factors for recurrence and progression include:[2-6]

- High-grade disease.
- Presence of carcinoma in situ.
- Tumor larger than 3 cm.
- Multiple tumors.
- History of prior bladder cancer.

Treatment options for stage 0 bladder cancer include:

1. Transurethral resection (TUR) with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy.
2. TUR with fulguration.
3. TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of bacillus Calmette-Guérin (BCG).
4. TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by intravesical chemotherapy.
5. Segmental cystectomy (rarely indicated).
6. Radical cystectomy (in rare, highly selected patients with extensive or refractory superficial high-grade tumors).

#### Transurethral resection (TUR) with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy

TUR and fulguration are the most common and conservative forms of management. Careful surveillance of subsequent bladder tumor progression is important. Because most bladder cancers recur after TUR, one immediate intravesical instillation of chemotherapy is often given after TUR. Numerous randomized controlled trials have evaluated this practice, and a meta-analysis of seven trials reported that a single intravesical treatment with chemotherapy reduced the odds of recurrence by 39% (odds ratio [OR], 0.61; P < .0001).[7,8] However, although a single instillation of chemotherapy lowers the relapse rate in patients with multiple tumors, most still relapse. Such treatment is insufficient by itself for these patients.

One retrospective series addressed the value of performing a second TUR within 2 to 6 weeks of the first TUR.[9][Level of evidence C3] A second TUR performed on 38 patients with Tis or Ta disease revealed that nine patients (24%) had lamina propria invasion (T1) and three patients (8%) had muscle invasion (T2).[9]

Such information may change the definitive management options in these individuals. Patients with extensive multifocal recurrent disease and/or other unfavorable prognostic features require more aggressive forms of treatment.

Evidence (TUR with fulguration followed by immediate postoperative instillation of intravesical chemotherapy):

1. A 2004 meta-analysis of seven randomized controlled trials (1,476 patients with stage Ta or stage T1 bladder cancer) compared TUR alone with TUR followed by a single immediate intravesical instillation of chemotherapy.[7]
  - The relapse rate was 48% for patients who received TUR alone and 37% for patients who received TUR plus intravesical chemotherapy (OR, 0.61; P < .0001). The risk of recurrence declined for patients with single (OR, 0.61) or multiple (OR, 0.44) tumors, but 65% of those with multiple tumors relapsed despite intravesical chemotherapy.
  - Agents studied included epirubicin, mitomycin (MMC), thiotepa, and pirarubicin.
2. A subsequent multicenter randomized controlled trial confirmed the reduction in risk of recurrence. A study that included 404 patients reported a relapse rate of 51% for patients who received epirubicin immediately after TUR and 63% for patients who received placebo immediately after TUR (P = .04). However, only small recurrences were prevented in this study, drawing into question the magnitude of benefit.[10]
3. Similarly, another multicenter randomized controlled trial confirmed the reduction in risk of recurrence. One study randomly assigned patients (N = 305) to receive either an instillation of epirubicin or no further treatment after TUR.[8]
  - The relapse rates were 62% for patients who received epirubicin and 77% for patients in the control arm (P = .016).
  - The hazard ratio for recurrence was 0.56 (P = .002) with epirubicin. However, the main benefit was seen in patients at lower risk of relapse. Among patients at intermediate or high risk of relapse, the relapse rates were 81% with epirubicin versus 85% with no further treatment (P = .35).

#### TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of BCG

Intravesical BCG is the treatment of choice for reducing the risk of cancer progression and is mainly used for cancers with an intermediate or high risk of progressing.[6,11-13] An individual patient meta-analysis of randomized trials compared intravesical BCG with intravesical MMC. The meta-analysis reported that there was a 32% reduction in risk of recurrence with BCG but only when the BCG treatment included a maintenance phase whereby BCG was given periodically for at least 1 year (typically an induction phase of six weekly treatments followed by three weekly treatments every 3 months).[12] Intravesical chemotherapy is tolerated better than intravesical BCG.[14-18] Although BCG may not prolong overall survival for Tis disease, it appears to afford complete response rates of about 70%, thereby decreasing the need for salvage cystectomy.[17] Studies show that intravesical BCG delays tumor recurrence and tumor progression.[18,19]

Intravesical therapy with thiotepa, MMC, doxorubicin, or BCG is most often used in patients with multiple tumors or recurrent tumors or as a prophylactic measure in high-risk patients after TUR.[20-22]

Evidence (TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of BCG):

Intravesical chemotherapy

1. Three meta-analyses of randomized controlled trials that compared TUR alone with TUR followed by intravesical chemotherapy reported that adjuvant therapy was associated with a statistically significant increase in time to recurrence.[23-25] No advantage has been shown with respect to survival or prevention of progression to invasive disease or metastases.

Intravesical BCG with maintenance BCG treatments

1. An individual patient meta-analysis of nine randomized trials (2,820 patients with Ta or T1 bladder cancer) that compared intravesical BCG with intravesical MMC was published.[12]
  - Among trials in which the BCG treatment included a maintenance component, there was a 32% reduction in risk of recurrence (P < .0001) compared with MMC. BCG was associated with a 28% increase in the risk of recurrence when there was no maintenance BCG administered compared with MMC.
  - There were no differences in progression or death.[12]
2. A meta-analysis of nine randomized controlled trials (2,410 patients) that compared intravesical BCG with MMC was published.[26]
  - Progression was observed in 7.67% of the patients who received BCG and 9.44% of patients who received MMC at a median follow-up of 26 months (P = .08).
  - When the analysis was limited to trials in which the BCG arm included a maintenance component, the progression rate was significantly lower in the patients who received BCG (OR, 0.66; 95% confidence interval, 0.47–0.94; P = .02).
3. A meta-analysis of the published results of nine randomized controlled trials that compared intravesical BCG with intravesical chemotherapy in 700 patients with carcinoma in situ of the bladder was published.[11]
  - With a median follow-up of 3.6 years, 47% of the BCG group had no evidence of disease and 26% of the chemotherapy group had no evidence of disease.
  - BCG was superior to MMC at preventing recurrence only when maintenance BCG was part of the treatment.
4. A controlled trial evaluated 384 patients randomly assigned to induction intravesical BCG or induction intravesical BCG followed by maintenance intravesical BCG.[27]
  - The median recurrence-free survival was 36 months without maintenance BCG and 77 months in the maintenance arm (P < .0001). The risk of disease worsening (progression to T2 or greater disease, use of cystectomy, systemic chemotherapy, or radiation therapy) was greater in the induction arm than in the maintenance arm (P = .04).
  - The 5-year overall survival rate was 78% in the induction arm versus 83% in the maintenance arm, but this difference was not statistically significant.

BCG is associated with a risk of significant toxicity, including rare deaths from BCG sepsis. Compared with MMC, BCG produces more local toxicity (44% with BCG vs. 30% with MMC) and systemic side effects (19% with BCG vs. 12% with MMC). Because of concerns about side effects and toxicity, BCG is not generally used for patients with a low risk of progression to advanced-stage disease.[6,26]

#### Segmental cystectomy (rarely indicated)

Segmental cystectomy is rarely indicated.[22] It is indicated for relatively few patients because of the tendency of bladder cancer to involve multiple regions of the bladder mucosa and to occur in areas that cannot be segmentally resected. Moreover, cystectomy (whether segmental or radical) is generally not indicated for T0 bladder cancer (see radical cystectomy below).[28,29]

#### Radical cystectomy (in rare, highly selected patients with extensive or refractory superficial high-grade tumors)

Radical cystectomy is used in selected patients with extensive or refractory superficial tumors,[2,30,31] based on reports that up to 20% of patients with Tis will die of bladder cancer. However, cystectomy (whether segmental or radical) is generally not indicated for patients with Ta or Tis bladder cancer. Patients at high risk of progression, typically those with recurrent high-grade tumors with carcinoma in situ after intravesical therapy with BCG, should consider radical cystectomy.[32-35]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Holmäng S, Hedelin H, Anderström C, et al.: The relationship among multiple recurrences, progression and prognosis of patients with stages Ta and T1 transitional cell cancer of the bladder followed for at least 20 years. J Urol 153 (6): 1823-6; discussion 1826-7, 1995.7752327 95271760
Herr HW: Tumor progression and survival of patients with high grade, noninvasive papillary (TaG3) bladder tumors: 15-year outcome. J Urol 163 (1): 60-1; discussion 61-2, 2000.10604314
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Upper urinary tract tumors after primary superficial bladder tumors: prognostic factors and risk groups. J Urol 164 (4): 1183-7, 2000.10992362
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Multivariate analysis of the prognostic factors of primary superficial bladder cancer. J Urol 163 (1): 73-8, 2000.10604317
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder. Eur Urol 54 (2): 303-14, 2008.18468779
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder, the 2011 update. Eur Urol 59 (6): 997-1008, 2011.21458150
Sylvester RJ, Oosterlinck W, van der Meijden AP: A single immediate postoperative instillation of chemotherapy decreases the risk of recurrence in patients with stage Ta T1 bladder cancer: a meta-analysis of published results of randomized clinical trials. J Urol 171 (6 Pt 1): 2186-90, quiz 2435, 2004.15126782
Gudjónsson S, Adell L, Merdasa F, et al.: Should all patients with non-muscle-invasive bladder cancer receive early intravesical chemotherapy after transurethral resection? The results of a prospective randomised multicentre study. Eur Urol 55 (4): 773-80, 2009.19153001
Herr HW: The value of a second transurethral resection in evaluating patients with bladder tumors. J Urol 162 (1): 74-6, 1999.10379743 99306411
Berrum-Svennung I, Granfors T, Jahnson S, et al.: A single instillation of epirubicin after transurethral resection of bladder tumors prevents only small recurrences. J Urol 179 (1): 101-5; discussion 105-6, 2008.17997459
Sylvester RJ, van der Meijden AP, Witjes JA, et al.: Bacillus calmette-guerin versus chemotherapy for the intravesical treatment of patients with carcinoma in situ of the bladder: a meta-analysis of the published results of randomized clinical trials. J Urol 174 (1): 86-91; discussion 91-2, 2005.15947584
Malmström PU, Sylvester RJ, Crawford DE, et al.: An individual patient data meta-analysis of the long-term outcome of randomised studies comparing intravesical mitomycin C versus bacillus Calmette-Guérin for non-muscle-invasive bladder cancer. Eur Urol 56 (2): 247-56, 2009.19409692
Stenzl A, Cowan NC, De Santis M, et al.: Treatment of muscle-invasive and metastatic bladder cancer: update of the EAU guidelines. Eur Urol 59 (6): 1009-18, 2011.21454009
Herr HW, Schwalb DM, Zhang ZF, et al.: Intravesical bacillus Calmette-Guérin therapy prevents tumor progression and death from superficial bladder cancer: ten-year follow-up of a prospective randomized trial. J Clin Oncol 13 (6): 1404-8, 1995.7751885 95271263
Sarosdy MF, Lamm DL: Long-term results of intravesical bacillus Calmette-Guerin therapy for superficial bladder cancer. J Urol 142 (3): 719-22, 1989.2769847 89362656
Catalona WJ, Hudson MA, Gillen DP, et al.: Risks and benefits of repeated courses of intravesical bacillus Calmette-Guerin therapy for superficial bladder cancer. J Urol 137 (2): 220-4, 1987.3806806 87113020
De Jager R, Guinan P, Lamm D, et al.: Long-term complete remission in bladder carcinoma in situ with intravesical TICE bacillus Calmette Guerin. Overview analysis of six phase II clinical trials. Urology 38 (6): 507-13, 1991.1836081 92081128
Herr HW, Wartinger DD, Fair WR, et al.: Bacillus Calmette-Guerin therapy for superficial bladder cancer: a 10-year followup. J Urol 147 (4): 1020-3, 1992.1552578 92203374
Lamm DL, Griffith JG: Intravesical therapy: does it affect the natural history of superficial bladder cancer? Semin Urol 10 (1): 39-44, 1992.1565903 92229181
Igawa M, Urakami S, Shirakawa H, et al.: Intravesical instillation of epirubicin: effect on tumour recurrence in patients with dysplastic epithelium after transurethral resection of superficial bladder tumour. Br J Urol 77 (3): 358-62, 1996.8814838 96247127
Lamm DL, Blumenstein BA, Crawford ED, et al.: A randomized trial of intravesical doxorubicin and immunotherapy with bacille Calmette-Guérin for transitional-cell carcinoma of the bladder. N Engl J Med 325 (17): 1205-9, 1991.1922207 92018034
Soloway MS: The management of superficial bladder cancer. In: Javadpour N, ed.: Principles and Management of Urologic Cancer. 2nd ed. Williams and Wilkins, 1983, pp 446-467.
Pawinski A, Sylvester R, Kurth KH, et al.: A combined analysis of European Organization for Research and Treatment of Cancer, and Medical Research Council randomized clinical trials for the prophylactic treatment of stage TaT1 bladder cancer. European Organization for Research and Treatment of Cancer Genitourinary Tract Cancer Cooperative Group and the Medical Research Council Working Party on Superficial Bladder Cancer. J Urol 156 (6): 1934-40, discussion 1940-1, 1996.8911360
Huncharek M, Geschwind JF, Witherspoon B, et al.: Intravesical chemotherapy prophylaxis in primary superficial bladder cancer: a meta-analysis of 3703 patients from 11 randomized trials. J Clin Epidemiol 53 (7): 676-80, 2000.10941943
Huncharek M, McGarry R, Kupelnick B: Impact of intravesical chemotherapy on recurrence rate of recurrent superficial transitional cell carcinoma of the bladder: results of a meta-analysis. Anticancer Res 21 (1B): 765-9, 2001 Jan-Feb.11299841
Böhle A, Bock PR: Intravesical bacille Calmette-Guérin versus mitomycin C in superficial bladder cancer: formal meta-analysis of comparative studies on tumor progression. Urology 63 (4): 682-6; discussion 686-7, 2004.15072879
Lamm DL, Blumenstein BA, Crissman JD, et al.: Maintenance bacillus Calmette-Guerin immunotherapy for recurrent TA, T1 and carcinoma in situ transitional cell carcinoma of the bladder: a randomized Southwest Oncology Group Study. J Urol 163 (4): 1124-9, 2000.10737480 20199741
Holzbeierlein JM, Lopez-Corona E, Bochner BH, et al.: Partial cystectomy: a contemporary review of the Memorial Sloan-Kettering Cancer Center experience and recommendations for patient selection. J Urol 172 (3): 878-81, 2004.15310988
Fahmy N, Aprikian A, Tanguay S, et al.: Practice patterns and recurrence after partial cystectomy for bladder cancer. World J Urol 28 (4): 419-23, 2010.19826825
Amling CL, Thrasher JB, Frazier HA, et al.: Radical cystectomy for stages Ta, Tis and T1 transitional cell carcinoma of the bladder. J Urol 151 (1): 31-5; discussion 35-6, 1994.8254828 94076518
Sylvester RJ, van der Meijden A, Witjes JA, et al.: High-grade Ta urothelial carcinoma and carcinoma in situ of the bladder. Urology 66 (6 Suppl 1): 90-107, 2005.16399418
Madersbacher S, Hochreiter W, Burkhard F, et al.: Radical cystectomy for bladder cancer today--a homogeneous series without neoadjuvant therapy. J Clin Oncol 21 (4): 690-6, 2003.12586807
Stein JP, Dunn MD, Quek ML, et al.: The orthotopic T pouch ileal neobladder: experience with 209 patients. J Urol 172 (2): 584-7, 2004.15247737
Lerner SP, Tangen CM, Sucharew H, et al.: Failure to achieve a complete response to induction BCG therapy is associated with increased risk of disease worsening and death in patients with high risk non-muscle invasive bladder cancer. Urol Oncol 27 (2): 155-9, 2009 Mar-Apr.18367117
Manoharan M, Ayyathurai R, Soloway MS: Radical cystectomy for urothelial carcinoma of the bladder: an analysis of perioperative and survival outcome. BJU Int 104 (9): 1227-32, 2009.19519764

## Treatment of Stage I Bladder Cancer

### Treatment Options for Stage I Bladder Cancer

Patients with stage I bladder tumors are unlikely to die of bladder cancer, but the tendency for new tumor formation is high. In a series of patients with Ta or T1 tumors who were followed for a minimum of 20 years or until death, the risk of bladder recurrence after initial resection was 80%.[1] Of greater concern than recurrence is the risk of progression to muscle-invasive, locally-advanced, or metastatic bladder cancer. While progression is rare for low-grade tumors, it is common among high-grade cancers.

One series of 125 patients with TaG3 cancers followed for 15 to 20 years reported that 39% progressed to more advanced stage disease, while 26% died of urothelial cancer. In comparison, among 23 patients with TaG1 tumors, none died and 5% progressed.[2] Risk factors for recurrence and progression include:[2-6]

- High-grade disease.
- Presence of carcinoma in situ.
- Tumor larger than 3 cm.
- Multiple tumors.
- History of prior bladder cancer.

Treatment options for stage I bladder cancer include:

1. Transurethral resection (TUR) with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy.
2. TUR with fulguration.
3. TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of bacillus Calmette-Guérin (BCG).
4. TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by intravesical chemotherapy.
5. Segmental cystectomy (rarely indicated).
6. Radical cystectomy (in selected patients with extensive or refractory superficial tumors).

#### TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy

TUR and fulguration are the most common and conservative forms of management. Careful surveillance of subsequent bladder tumor progression is important. Because most bladder cancers recur after TUR, one immediate intravesical instillation of chemotherapy after TUR is widely used. Numerous randomized controlled trials have evaluated this practice, and a meta-analysis of seven trials reported that a single intravesical treatment with chemotherapy reduced the odds of recurrence by 39% (odds ratio [OR], 0.61; P < .0001).[7,8]

#### TUR with fulguration

Staging a bladder cancer via TUR is based on the extent of invasion. To assess whether cancer has invaded the muscle, muscularis propria must be present in the resected tissue. While a repeat TUR is generally considered mandatory for T1 and high-grade noninvasive bladder cancers if no muscularis propria is present in the resected tissue from the first TUR, many experts recommend that a second TUR be routinely performed within 2 to 6 weeks of the first TUR to confirm staging and achieve a more complete resection. The rationale for this derives from numerous findings, including:

- The risk of local recurrence after TUR is high.
- Residual cancer is often found when a repeat TUR is performed.
- More-advanced–stage cancer is sometimes found with repeat TUR.
- Patients undergoing radical cystectomy for nonmuscle-invasive bladder cancer are often found to have T2 or greater disease when the cystectomy specimen is examined.
- A substantial number of patients with high-grade nonmuscle-invasive bladder cancer subsequently die of their disease.

Evidence (routine repeat TUR):

1. A review of more than 2,400 patients from over 60 different institutions reported a 3-month recurrence rate of roughly 14% to 20% after TUR, while a literature review reported that up to 10% of patients who underwent a second TUR for Ta to T1 cancer were upstaged to T2.[9] The likelihood of being upstaged to T2 is much higher when no muscularis propria is present in the initial TUR tissue.[10]
2. One retrospective series of 38 patients with Tis or Ta disease who underwent a second TUR found that nine patients (24%) had lamina propria invasion (T1) and three patients (8%) had muscle invasion (T2).[11]
3. A subsequent study from a different institution reported that among 214 patients with Ta to T1 cancers who underwent a second TUR, 27% of Ta and 37% of T1 patients had residual cancer detected.[12]
4. A review of other published papers reported that residual tumor was present in 27% to 62% of cases, and muscle-invasive disease was discovered in 1% to 10% of case series with at least 50 patients.[10]

Repeat TUR has not been shown to reduce relapse rates or prolong survival, but there is a clear rationale for seeking accurate staging information on which to base treatment decisions. Such information may change the definitive management options for patients and identify patients who are more likely to benefit from more aggressive treatment.

#### TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by periodic intravesical instillations of BCG

Intravesical BCG is the treatment of choice for reducing the risk of cancer progression and is mainly used for cancers with an intermediate or high risk of progressing.[6,13-15] An individual patient meta-analysis of randomized trials that compared intravesical BCG with intravesical mitomycin (MMC) reported that there was a 32% reduction in risk of recurrence with BCG but only when the BCG treatment included a maintenance phase whereby BCG was given periodically for at least 1 year (typically an induction phase of six weekly treatments followed by three weekly treatments every 3 months).[14] Intravesical chemotherapy is tolerated better than intravesical BCG.[16-20] Although BCG may not prolong overall survival for Tis disease, it appears to afford complete response rates of about 70%, thereby decreasing the need for salvage cystectomy.[19] Studies show that intravesical BCG delays tumor recurrence and tumor progression.[20,21]

Evidence (immediate intravesical chemotherapy after transurethral resection):

1. A 2004 meta-analysis of seven randomized controlled trials (1,476 patients with Ta or T1 bladder cancer) compared TUR alone with TUR followed by a single immediate intravesical instillation of chemotherapy. Agents studied included epirubicin, MMC, thiotepa, and pirarubicin.[7]
  - The relapse rates were 48% for patients who received TUR alone and 37% for patients who received TUR plus intravesical chemotherapy (OR, 0.61; P < .0001). The risk of recurrence declined for patients with single (OR, 0.61) or multiple (OR, 0.44) tumors, but 65% of those with multiple tumors relapsed despite intravesical chemotherapy.
2. A subsequent multicenter randomized controlled trial confirmed the reduction in risk of recurrence. A study that included 404 patients reported a relapse rate of 51% for patients who received epirubicin immediately after TUR and 63% for patients who received placebo immediately after TUR (P = .04). However, only small recurrences were prevented in this study, drawing into question the magnitude of benefit.[22]
3. Similarly, another multicenter randomized controlled trial confirmed the reduction in risk of recurrence. One study randomly assigned patients (N = 305) to receive either an instillation of epirubicin or no further treatment after TUR.[8]
  - The relapse rates were 62% for patients who received epirubicin and 77% for patients in the control arm (P = .016).
  - The hazard ratio for recurrence was 0.56 (P = .002) with epirubicin. However, the main benefit was seen in patients at lower risk of relapse. Among patients at intermediate or high risk of relapse, the relapse rates were 81% with epirubicin versus 85% with no further treatment (P = .35).

Evidence (intravesical BCG with maintenance BCG treatments):

1. An individual patient meta-analysis of nine randomized trials (2,820 patients with Ta or T1 bladder cancer) that compared intravesical BCG with intravesical MMC was published.[14]
  - Among trials in which the BCG treatment included a maintenance component, there was a 32% reduction in risk of recurrence (P < .0001) compared with MMC. BCG was associated with a 28% increase in the risk of recurrence when no maintenance BCG was given compared with MMC.
  - There were no differences in progression or death.
2. A meta-analysis of nine randomized controlled trials (2,410 patients) that compared intravesical BCG with MMC was published.[23]
  - Progression was seen in 7.67% of the patients who received BCG and 9.44% of patients who received MMC at a median follow-up of 26 months (P = .08).
  - When the analysis was limited to trials in which the BCG arm included a maintenance component, the progression rate was significantly lower in the patients who received BCG (OR, 0.66; 95% confidence interval, 0.47–0.94; P = .02).
3. A meta-analysis of the published results of nine randomized controlled trials that compared intravesical BCG with intravesical chemotherapy in 700 patients with carcinoma in situ of the bladder was published.[13]
  - With a median follow-up of 3.6 years, 47% of the BCG group had no evidence of disease and 26% of the chemotherapy group had no evidence of disease.
  - In this meta-analysis, BCG was superior to MMC at preventing recurrence only when maintenance BCG was part of the treatment.
4. A controlled trial evaluated 384 patients randomly assigned to induction intravesical BCG or induction intravesical BCG followed by maintenance intravesical BCG.[24]
  - Median recurrence-free survival was 36 months without maintenance BCG and 77 months in the maintenance arm (P < .0001). The risk of disease worsening (progression to T2 or greater disease, use of cystectomy, systemic chemotherapy, or radiation therapy) was greater in the induction arm than in the maintenance arm (P = .04).
  - The 5-year overall survival rate was 78% in the induction arm versus 83% in the maintenance arm, but this difference was not statistically significant.

BCG is associated with a risk of significant toxicity, including rare deaths from BCG sepsis. Compared with MMC, BCG produces more local toxicity (44% with BCG vs. 30% with MMC) and systemic side effects (19% with BCG vs. 12% with MMC). Because of concerns about side effects and toxicity, BCG is not generally used for patients with a low risk of progression to more-advanced–stage disease.[6,23]

Evidence (two treatment courses of intravesical BCG):

1. Two nonconsecutive 6-week courses with BCG may be necessary to obtain optimal response.[25] Patients with a T1 tumor at the 3-month evaluation after a 6-week course of BCG and patients with Tis that persists after a second 6-week BCG course have a high likelihood of developing muscle-invasive disease and should be considered for cystectomy.[18,25,26]

#### TUR with fulguration followed by an immediate postoperative instillation of intravesical chemotherapy followed by intravesical chemotherapy

Intravesical therapy with thiotepa, MMC, doxorubicin, or BCG is most often used in patients with multiple tumors or recurrent tumors or as a prophylactic measure in high-risk patients after TUR.[27,28]

Evidence (intravesical chemotherapy):

1. Three meta-analyses of randomized controlled trials that compared TUR alone with TUR followed by intravesical chemotherapy reported that adjuvant therapy was associated with a statistically significant increase in time to recurrence. No advantage has been shown with respect to survival or prevention of progression to invasive disease or metastases.[29-31]
  - One analysis of eight studies with a combined total of 1,609 patients reported that intravesical chemotherapy reduced the risk of relapse at 1 year by 38% and by as much as 70% at 3 years, depending on which drugs were used.[30]
  - Another analysis of 11 studies that enrolled a total of 3,703 patients reported a 44% reduction in 1-year recurrence rates.[30]
  - An earlier study of 2,535 patients enrolled in six different randomized controlled trials reported a decreased risk of recurrence but not significant benefit with regard to risk of progression to more-advanced–stage disease or survival.[29]

#### Segmental cystectomy (rarely indicated)

Segmental cystectomy is rarely indicated.[32] It is indicated for relatively few patients because of the tendency of bladder carcinoma to involve multiple regions of the bladder mucosa and to occur in areas that cannot be segmentally resected. Moreover, cystectomy (whether segmental or radical) is generally not indicated for patients with T0 bladder cancer.[33,34]

#### Radical cystectomy in selected patients with extensive or refractory superficial tumors

Radical cystectomy is used in selected patients with extensive or refractory superficial tumors.[35-43] Patients at high risk of progression, typically those with recurrent high-grade tumors with carcinoma in situ after intravesical therapy with BCG, should consider radical cystectomy. Other risk factors include multiple tumors and tumors larger than 3 cm.

Certain patients with nonmuscle-invasive bladder cancer face a substantial risk of progression and death from their cancers.

Evidence (radical cystectomy):

1. One analysis of 307 patients enrolled in studies of intravesical BCG in the 1980s reported that among 85 patients with T1 recurrence, 60 progressed to at least stage II disease. Five years after T1 recurrence, 71% had progressed and 48% had died of their cancer.[44]
2. By comparison, in another cohort of 589 patients treated with BCG between 1992 and 2004, 65 of the 120 patients with T1 recurrence underwent immediate cystectomy. Among all patients with T1 recurrence, 28% progressed to more-advanced–stage disease and 31% died of their cancer. While these data confirm that patients with recurring cancer after intravesical BCG face a substantial risk of dying of their disease, they do not provide strong evidence that immediate cystectomy results in a lower risk of death or progression.[44]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Holmäng S, Hedelin H, Anderström C, et al.: The relationship among multiple recurrences, progression and prognosis of patients with stages Ta and T1 transitional cell cancer of the bladder followed for at least 20 years. J Urol 153 (6): 1823-6; discussion 1826-7, 1995.7752327 95271760
Herr HW: Tumor progression and survival of patients with high grade, noninvasive papillary (TaG3) bladder tumors: 15-year outcome. J Urol 163 (1): 60-1; discussion 61-2, 2000.10604314
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Upper urinary tract tumors after primary superficial bladder tumors: prognostic factors and risk groups. J Urol 164 (4): 1183-7, 2000.10992362
Millán-Rodríguez F, Chéchile-Toniolo G, Salvador-Bayarri J, et al.: Multivariate analysis of the prognostic factors of primary superficial bladder cancer. J Urol 163 (1): 73-8, 2000.10604317
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder. Eur Urol 54 (2): 303-14, 2008.18468779
Babjuk M, Oosterlinck W, Sylvester R, et al.: EAU guidelines on non-muscle-invasive urothelial carcinoma of the bladder, the 2011 update. Eur Urol 59 (6): 997-1008, 2011.21458150
Sylvester RJ, Oosterlinck W, van der Meijden AP: A single immediate postoperative instillation of chemotherapy decreases the risk of recurrence in patients with stage Ta T1 bladder cancer: a meta-analysis of published results of randomized clinical trials. J Urol 171 (6 Pt 1): 2186-90, quiz 2435, 2004.15126782
Gudjónsson S, Adell L, Merdasa F, et al.: Should all patients with non-muscle-invasive bladder cancer receive early intravesical chemotherapy after transurethral resection? The results of a prospective randomised multicentre study. Eur Urol 55 (4): 773-80, 2009.19153001
Brausi M, Collette L, Kurth K, et al.: Variability in the recurrence rate at first follow-up cystoscopy after TUR in stage Ta T1 transitional cell carcinoma of the bladder: a combined analysis of seven EORTC studies. Eur Urol 41 (5): 523-31, 2002.12074794
Jakse G, Algaba F, Malmström PU, et al.: A second-look TUR in T1 transitional cell carcinoma: why? Eur Urol 45 (5): 539-46; discussion 546, 2004.15082193
Herr HW: The value of a second transurethral resection in evaluating patients with bladder tumors. J Urol 162 (1): 74-6, 1999.10379743 99306411
Zurkirchen MA, Sulser T, Gaspert A, et al.: Second transurethral resection of superficial transitional cell carcinoma of the bladder: a must even for experienced urologists. Urol Int 72 (2): 99-102, 2004.14963348
Sylvester RJ, van der Meijden AP, Witjes JA, et al.: Bacillus calmette-guerin versus chemotherapy for the intravesical treatment of patients with carcinoma in situ of the bladder: a meta-analysis of the published results of randomized clinical trials. J Urol 174 (1): 86-91; discussion 91-2, 2005.15947584
Malmström PU, Sylvester RJ, Crawford DE, et al.: An individual patient data meta-analysis of the long-term outcome of randomised studies comparing intravesical mitomycin C versus bacillus Calmette-Guérin for non-muscle-invasive bladder cancer. Eur Urol 56 (2): 247-56, 2009.19409692
Stenzl A, Cowan NC, De Santis M, et al.: Treatment of muscle-invasive and metastatic bladder cancer: update of the EAU guidelines. Eur Urol 59 (6): 1009-18, 2011.21454009
Herr HW, Schwalb DM, Zhang ZF, et al.: Intravesical bacillus Calmette-Guérin therapy prevents tumor progression and death from superficial bladder cancer: ten-year follow-up of a prospective randomized trial. J Clin Oncol 13 (6): 1404-8, 1995.7751885 95271263
Sarosdy MF, Lamm DL: Long-term results of intravesical bacillus Calmette-Guerin therapy for superficial bladder cancer. J Urol 142 (3): 719-22, 1989.2769847 89362656
Catalona WJ, Hudson MA, Gillen DP, et al.: Risks and benefits of repeated courses of intravesical bacillus Calmette-Guerin therapy for superficial bladder cancer. J Urol 137 (2): 220-4, 1987.3806806 87113020
De Jager R, Guinan P, Lamm D, et al.: Long-term complete remission in bladder carcinoma in situ with intravesical TICE bacillus Calmette Guerin. Overview analysis of six phase II clinical trials. Urology 38 (6): 507-13, 1991.1836081 92081128
Herr HW, Wartinger DD, Fair WR, et al.: Bacillus Calmette-Guerin therapy for superficial bladder cancer: a 10-year followup. J Urol 147 (4): 1020-3, 1992.1552578 92203374
Lamm DL, Griffith JG: Intravesical therapy: does it affect the natural history of superficial bladder cancer? Semin Urol 10 (1): 39-44, 1992.1565903 92229181
Berrum-Svennung I, Granfors T, Jahnson S, et al.: A single instillation of epirubicin after transurethral resection of bladder tumors prevents only small recurrences. J Urol 179 (1): 101-5; discussion 105-6, 2008.17997459
Böhle A, Bock PR: Intravesical bacille Calmette-Guérin versus mitomycin C in superficial bladder cancer: formal meta-analysis of comparative studies on tumor progression. Urology 63 (4): 682-6; discussion 686-7, 2004.15072879
Lamm DL, Blumenstein BA, Crissman JD, et al.: Maintenance bacillus Calmette-Guerin immunotherapy for recurrent TA, T1 and carcinoma in situ transitional cell carcinoma of the bladder: a randomized Southwest Oncology Group Study. J Urol 163 (4): 1124-9, 2000.10737480 20199741
Coplen DE, Marcus MD, Myers JA, et al.: Long-term followup of patients treated with 1 or 2, 6-week courses of intravesical bacillus Calmette-Guerin: analysis of possible predictors of response free of tumor. J Urol 144 (3): 652-7, 1990.2388321 90355289
Herr HW: Progression of stage T1 bladder tumors after intravesical bacillus Calmette-Guerin. J Urol 145 (1): 40-3; discussion 43-4, 1991.1984096 91073545
Igawa M, Urakami S, Shirakawa H, et al.: Intravesical instillation of epirubicin: effect on tumour recurrence in patients with dysplastic epithelium after transurethral resection of superficial bladder tumour. Br J Urol 77 (3): 358-62, 1996.8814838 96247127
Rintala E, Jauhiainen K, Kaasinen E, et al.: Alternating mitomycin C and bacillus Calmette-Guerin instillation prophylaxis for recurrent papillary (stages Ta to T1) superficial bladder cancer. Finnbladder Group. J Urol 156 (1): 56-9; discussion 59-60, 1996.8648837 96237693
Pawinski A, Sylvester R, Kurth KH, et al.: A combined analysis of European Organization for Research and Treatment of Cancer, and Medical Research Council randomized clinical trials for the prophylactic treatment of stage TaT1 bladder cancer. European Organization for Research and Treatment of Cancer Genitourinary Tract Cancer Cooperative Group and the Medical Research Council Working Party on Superficial Bladder Cancer. J Urol 156 (6): 1934-40, discussion 1940-1, 1996.8911360
Huncharek M, Geschwind JF, Witherspoon B, et al.: Intravesical chemotherapy prophylaxis in primary superficial bladder cancer: a meta-analysis of 3703 patients from 11 randomized trials. J Clin Epidemiol 53 (7): 676-80, 2000.10941943
Huncharek M, McGarry R, Kupelnick B: Impact of intravesical chemotherapy on recurrence rate of recurrent superficial transitional cell carcinoma of the bladder: results of a meta-analysis. Anticancer Res 21 (1B): 765-9, 2001 Jan-Feb.11299841
Soloway MS: The management of superficial bladder cancer. In: Javadpour N, ed.: Principles and Management of Urologic Cancer. 2nd ed. Williams and Wilkins, 1983, pp 446-467.
Holzbeierlein JM, Lopez-Corona E, Bochner BH, et al.: Partial cystectomy: a contemporary review of the Memorial Sloan-Kettering Cancer Center experience and recommendations for patient selection. J Urol 172 (3): 878-81, 2004.15310988
Fahmy N, Aprikian A, Tanguay S, et al.: Practice patterns and recurrence after partial cystectomy for bladder cancer. World J Urol 28 (4): 419-23, 2010.19826825
Lambert EH, Pierorazio PM, Olsson CA, et al.: The increasing use of intravesical therapies for stage T1 bladder cancer coincides with decreasing survival after cystectomy. BJU Int 100 (1): 33-6, 2007.17552951
Skinner EC: The best treatment for high-grade T1 bladder cancer is cystectomy. Urol Oncol 25 (6): 523-5, 2007 Nov-Dec.18047965
Stein JP, Penson DF: Invasive T1 bladder cancer: indications and rationale for radical cystectomy. BJU Int 102 (3): 270-5, 2008.18494831
Boström PJ, Alkhateeb S, van Rhijn BW, et al.: Optimal timing of radical cystectomy in T1 high-grade bladder cancer. Expert Rev Anticancer Ther 10 (12): 1891-902, 2010.21110756
Fritsche HM, Burger M, Svatek RS, et al.: Characteristics and outcomes of patients with clinical T1 grade 3 urothelial carcinoma treated with radical cystectomy: results from an international cohort. Eur Urol 57 (2): 300-9, 2010.19766384
Ali-El-Dein B, Al-Marhoon MS, Abdel-Latif M, et al.: Survival after primary and deferred cystectomy for stage T1 transitional cell carcinoma of the bladder. Urol Ann 3 (3): 127-32, 2011.21976924
Canter D, Egleston B, Wong YN, et al.: Use of radical cystectomy as initial therapy for the treatment of high-grade T1 urothelial carcinoma of the bladder: a SEER database analysis. Urol Oncol 31 (6): 866-70, 2013.21906968
Chalasani V, Kassouf W, Chin JL, et al.: Radical cystectomy for the treatment of T1 bladder cancer: the Canadian Bladder Cancer Network experience. Can Urol Assoc J 5 (2): 83-7, 2011.21470529
Segal R, Yafi FA, Brimo F, et al.: Prognostic factors and outcome in patients with T1 high-grade bladder cancer: can we identify patients for early cystectomy? BJU Int 109 (7): 1026-30, 2012.21883838
Raj GV, Herr H, Serio AM, et al.: Treatment paradigm shift may improve survival of patients with high risk superficial bladder cancer. J Urol 177 (4): 1283-6; discussion 1286, 2007.17382713

## Treatment of Stages II and III Bladder Cancer

### Treatment Options for Stages II and III Bladder Cancer

Treatment options for stage II bladder cancer and stage III bladder cancer include:

1. Radical cystectomy.
2. Neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy.
3. Neoadjuvant combination chemotherapy followed by radical cystectomy.
4. Radical cystectomy followed by adjuvant chemotherapy or immunotherapy.
5. External-beam radiation therapy (EBRT) with or without concomitant chemotherapy.
6. Segmental cystectomy (in selected patients).
7. Transurethral resection (TUR) with fulguration (in selected patients).

The most common treatments for muscle-invasive bladder cancer are radical cystectomy and radiation therapy. There is no strong evidence from randomized controlled trials to determine whether surgery or radiation therapy is more effective. There is strong evidence that both therapies are more effective when combined with chemotherapy. The treatments with the highest levels of evidence supporting their effectiveness are radical cystectomy preceded by multiagent cisplatin-based chemotherapy and radiation therapy with concomitant chemotherapy.

Because bladder cancer commonly recurs with distant metastases, studies have evaluated giving systemic immunotherapy or chemotherapy before or after cystectomy as a means of improving outcomes.

#### Radical cystectomy

Radical cystectomy is a standard treatment option for stage II and stage III bladder cancer, and its effectiveness at prolonging survival increases if it is preceded by cisplatin-based multiagent chemotherapy.[1-4] Radical cystectomy is accompanied by pelvic lymph node dissection and includes removal of the bladder, perivesical tissues, prostate, and seminal vesicles in men and removal of the uterus, fallopian tubes, ovaries, anterior vaginal wall, and urethra in women.[5 -8] Studies of outcomes after radical cystectomy report increased survival in patients who had more, rather than fewer, lymph nodes resected. It is unknown whether this represents a therapeutic benefit of resecting additional nodes or stage migration.[9] There are no randomized controlled trials evaluating the therapeutic benefit of lymph node dissection in this setting.

Radical cystectomy is a major operation with a perioperative mortality rate of 2% to 3% when performed at centers of excellence.[6-8] Postoperative complications include ileus. Most men have erectile dysfunction after radical cystectomy. Sexual dysfunction after this operation is also common in women.[10-12]

One study of 27 women who underwent radical cystectomy reported diminished ability to have orgasm in 45%, decreased lubrication in 41%, decreased sexual desire in 37%, and pain with vaginal intercourse in 22%. Fewer than one-half were able to have successful vaginal intercourse and most reported decreased satisfaction with their sexual lives after surgery.[12] Studies suggest that radical cystectomy with preservation of sexual function can be performed in some men. In addition, new forms of urinary diversion can obviate the need for an external urinary appliance.[13-16]

In a retrospective analysis from a single institution, older patients (≥70 years) in good general health were found to have clinical and functional results after radical cystectomy similar to younger patients.[17]

After radical cystectomy, however, an approximate 30% to 40% risk of recurrence still exists for patients with muscle-invasive disease, even at centers of excellence.[6-8] The 5-year overall survival (OS) rates range from 50% to 60%, but these rates vary by cancer stage.[4] The addition of preoperative radiation therapy to radical cystectomy did not result in any survival advantage when compared with radical cystectomy alone in a prospective randomized trial.[18]

#### Neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy

In patients eligible for immunotherapy, adding perioperative immunotherapy to standard-of-care cisplatin-based combination chemotherapy before radical cystectomy may further improve survival.

Evidence (neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy):

1. A randomized controlled trial (NIAGARA (https://www.cancer.gov/clinicaltrials/NCT03732677) [NCT03732677]) compared neoadjuvant durvalumab plus gemcitabine and cisplatin followed by radical cystectomy and adjuvant durvalumab (durvalumab arm) with neoadjuvant gemcitabine and cisplatin followed by radical cystectomy (comparison arm). The study included 1,063 patients with clinical stage T2 or higher muscle-invasive bladder cancer. Patients were eligible to receive cisplatin if they had a creatinine clearance of at least 40 mL/min. Four cycles of neoadjuvant durvalumab (1,500 mg) were given every 3 weeks, and up to eight cycles of adjuvant durvalumab (1,500 mg) were given every 4 weeks.[19][Level of evidence A1]
  - At 24 months, the OS rate was 82.2% (95% confidence interval [CI], 78.7%–85.2%) in the durvalumab arm and 75.2% (95% CI, 71.3%–78.8%) in the comparison arm (hazard ratio [HR], 0.75; 95% CI, 0.59–0.93).
  - At 24 months, the event-free survival (EFS) rate was 67.8% (95% CI, 63.6%–71.7%) in the durvalumab arm and 59.8% (95% CI, 55.4%–64.0%) in the comparison arm (HR, 0.68; 95% CI, 0.56–0.82).
  - Grade 3 or higher treatment-related adverse events occurred in 40.6% of patients in the durvalumab arm and 40.9% of patients in the comparison arm.
  - Radical cystectomy was performed in 88.0% of patients in the durvalumab arm and 83.2% of patients in the comparison arm.

#### Neoadjuvant combination chemotherapy followed by radical cystectomy

Giving chemotherapy before cystectomy (i.e., neoadjuvant chemotherapy) may be preferable to postoperative treatment because tumor downstaging from chemotherapy may enhance resectability; occult metastatic disease may be treated as early as possible; and chemotherapy may be better tolerated. Currently, the body of evidence supporting preoperative chemotherapy is much stronger than the evidence supporting postoperative chemotherapy.

Evidence (neoadjuvant combination chemotherapy followed by radical cystectomy):

1. A controlled trial of preoperative chemotherapy conducted by the Medical Research Council and the European Organisation for Research and Treatment of Cancer included 976 patients with locally advanced (T3 or T4a) or high-grade muscle-invasive (T2) bladder cancer. Patients were randomly assigned to undergo either definitive treatment immediately or definitive treatment preceded by three cycles of neoadjuvant cisplatin, vinblastine, and methotrexate.[20,21] In this study, definitive treatment consisted of radical cystectomy (n = 428), radiation therapy (n = 403), or preoperative radiation therapy followed by radical cystectomy (n = 66).
  - At a median follow-up of 8.0 years for patients still alive, OS was significantly greater in the arm randomly assigned to receive neoadjuvant chemotherapy (HR, 0.84; 95% CI, 0.72–0.99; P = .037). The survival benefit from neoadjuvant chemotherapy compared with definitive treatment alone conferred a 6% absolute increase in the likelihood of being alive at 3 years (56% vs. 50%), 5 years (49% vs. 43%), and 10 years (36% vs. 30%).[21][Level of evidence A1]
2. A randomized study conducted by the Southwest Oncology Group compared three cycles of neoadjuvant cisplatin, methotrexate, vinblastine, and doxorubicin administered before cystectomy with cystectomy alone in 317 patients with stage T2 to stage T4a bladder cancer.[22]
  - The study showed that the 5-year survival rate was 57% in the group that received neoadjuvant chemotherapy and 43% in the group treated with cystectomy alone. This difference was of borderline statistical significance (two-sided P value = .06 by stratified log-rank test).
  - No deaths were associated with neoadjuvant chemotherapy, and there was no difference in the rate or severity of postoperative complications in patients who received immediate surgery and in those who received preoperative chemotherapy. Cystectomy was performed as planned for 82% of patients assigned to preoperative chemotherapy and 81% of those assigned to cystectomy alone. This study provided evidence that preoperative chemotherapy does not prevent patients from undergoing cystectomy and does not increase the risk of perioperative complications.
  - Thirty-eight percent of patients who received neoadjuvant chemotherapy had a pathological complete response at the time of surgery, and 85% of those who achieved a pathological complete response were alive at 5 years.
3. A meta-analysis of ten randomized trials of neoadjuvant chemotherapy included updated data for 2,688 individual patients.[2]
  - Cisplatin-based combination chemotherapy was associated with a significant 13% relative reduction in the risk of death and resulted in an improvement in 5-year survival rates from 45% to 50% (P = .016).
  - Neoadjuvant single-agent cisplatin was not associated with any survival benefit in the meta-analysis.
4. A subsequent meta-analysis evaluated a nearly identical body of data (11 randomized controlled trials enrolling a total of 2,605 patients) and reached similar conclusions. When the analysis was limited to the eight trials that used multiagent, cisplatin-based chemotherapy, neoadjuvant chemotherapy compared with cystectomy alone was associated with a 6.5% absolute benefit in the 5-year OS rate (56.5% vs. 50%; P = .006).[4]

Most patients included in these studies received cisplatin, methotrexate, and vinblastine with or without doxorubicin. It is not known whether the doublet regimen of cisplatin plus gemcitabine offers any benefit when given in the preoperative setting, nor is there any evidence of benefit for carboplatin-based chemotherapy regimens.

Based on these findings, preoperative cisplatin-based combination chemotherapy followed by radical cystectomy represents a standard therapeutic option for patients with muscle-invasive bladder cancer who are fit for chemotherapy and for whom the priority is to maximize survival.

#### Radical cystectomy followed by adjuvant chemotherapy or immunotherapy

##### Adjuvant chemotherapy

Numerous trials have investigated whether giving chemotherapy after radical cystectomy can improve progression-free survival (PFS) and OS. Although several trials showed a PFS benefit from postoperative cisplatin-based chemotherapy, the trials tended to be small and underpowered, and no trial demonstrated a persuasive benefit in OS.

Evidence (adjuvant chemotherapy):

1. A systematic review and meta-analysis evaluated nine randomized controlled trials that enrolled 945 patients. A variety of different cisplatin-based chemotherapy regimens were used.[23][Level of evidence A2]
  - This analysis reported a significant OS benefit for patients who received adjuvant chemotherapy (HR, 0.77; 95% CI, 0.49–0.99).
  - The disease-free survival (DFS) benefit was similar (HR, 0.66; 95% CI, 0.45–0.91).

##### Adjuvant immunotherapy

Evidence (adjuvant immunotherapy):

1. A randomized controlled trial (Checkmate 274 (https://www.cancer.gov/clinicaltrials/NCT02632409) [NCT02632409]) compared nivolumab with placebo in 709 patients with pathological T3, T4, or node-positive muscle-invasive urothelial carcinoma who had undergone radical cystectomy. Of note, the patients in this trial had either received preoperative cisplatin-based chemotherapy, refused postoperative cisplatin-based chemotherapy, or been deemed unfit for cisplatin-based chemotherapy.[24][Level of evidence A1]
  - At a median follow-up of 36.1 months, the OS was 69.6 months (95% CI, 58.1–not estimable [NE]) in the nivolumab arm and 50.1 months (95% CI, 38.2–NE) in the placebo arm (HR, 0.76; 95% CI, 0.61–0.96). In patients with programmed death-ligand 1 (PD-L1) expression of 1% or higher (approximately 40% of all enrolled patients), the median OS was not reached in either arm (HR, 0.56; 95% CI, 0.36–0.86).
  - The median DFS was 22.0 months (95% CI, 18.8–36.9) in the nivolumab arm and 10.9 months (95% CI, 8.3–15.2) in the placebo arm (HR, 0.71; 95% CI, 0.58–0.86). In patients with PD-L1 expression of 1% or greater, the median DFS was 52.6 months (95% CI, 25.8–NE) in the nivolumab arm and 8.4 months (95% CI, 5.6–17.9) in the placebo arm (HR, 0.52; 95% CI, 0.37–0.72).
  - In patients with PD-L1 expression of less than 1% in the intent-to-treat population, the HR for median DFS for nivolumab compared to placebo was 0.84 (95% CI, 0.66–1.06). In patients with PD-L1 expression of less than 1% and muscle-invasive bladder cancer (79% of enrolled patients), the median DFS was 18.3 months (95% CI, 14.1–22.4) in the nivolumab arm and 9.7 months (95% CI, 7.4–16.6) in the placebo arm (HR, 0.74; 95% CI, 0.56–0.97). OS data were not included in the supplement for patients with PD-L1 expression of less than 1%.
  - Grade 3 or higher adverse events were seen in 42.7% of patients in the nivolumab arm and 36.8% of patients in the placebo arm. High-grade treatment-related adverse events were seen in 18.2% of patients in the nivolumab arm and 7.2% of patients in the placebo arm. The most common adverse events were pruritus, fatigue, and diarrhea, while the most common grade 3 or higher adverse events were elevated lipase or amylase, diarrhea, colitis, and pneumonitis. Two patients in the nivolumab arm died of pneumonitis, and one patient died of a bowel perforation.
2. A randomized controlled trial (AMBASSADOR (https://www.cancer.gov/clinicaltrials/NCT03244384) [NCT03244384]) compared adjuvant pembrolizumab with observation in 702 patients. Patients had undergone radical cystectomy and had positive margins, node-positive disease, and either pathological T2 or higher stage disease (if neoadjuvant cisplatin-based chemotherapy was received) or T3 or higher disease (if no neoadjuvant chemotherapy had been received).[25][Level of evidence B1]
  - At a median follow-up of 44.8 months, the DFS was 26.9 months (95% CI, 20.0–40.7) in the pembrolizumab arm and 14.2 months (95% CI, 11.0–20.2) in the observation arm (HR, 0.73; 95% CI, 0.59–0.90).
  - In patients with a PD-L1 combined positive score (CPS) of at least 10 (57.5% of all enrolled patients), the median DFS was 36.9 months (95% CI, 27.2–NE) in the pembrolizumab arm and 21.0 months (95% CI, 13.6–53.3) in the observation arm (HR, 0.81; 95% CI, 0.61–1.08). In patients with a PD–L1 CPS less than 10 (42.5% of all enrolled patients), the median DFS was 17.3 months (95% CI, 13.2–32.0) in the pembrolizumab arm and 9.0 months (95% CI, 6.9–15.3) in the observation arm (HR, 0.71; 95% CI, 0.53–0.95).
  - The 3-year OS rate was not significantly different, at 60.5% for patients in the pembrolizumab arm and 61.9% for patients in the observation arm (HR, 0.98; 95% CI, 0.76–1.26).
  - Grade 3 or higher adverse events occurred in 50.6% of patients in the pembrolizumab arm and 31.6% of patients in the observation arm.

#### EBRT with or without concomitant chemotherapy

Definitive radiation therapy is a standard option that yields 5-year survival rates of approximately 30% to 40%.[26] When radiation therapy and chemotherapy are administered concomitantly, the results are better. However, while the addition of chemotherapy to radiation therapy has been shown to reduce local relapse rates, it has not been shown to result in increased survival, decreased mortality, or improved quality of life.

Most protocols for bladder preservation that use combined chemotherapy and radiation therapy have followed a relatively complex algorithm. After the initial stage TUR of the bladder tumor, patients undergo a repeat TUR to maximally resect the tumor. The patient is then treated with synchronous chemoradiation therapy to a dose of roughly 40 Gy followed by a repeat cystoscopy with biopsies to assess for residual cancer. If residual cancer is detected histopathologically, then the chemoradiation therapy is judged to have failed and the patient is advised to undergo a radical cystectomy. If the biopsies at 40 Gy are benign, then chemoradiation therapy is completed to a dose of about 65 Gy.

With definitive radiation therapy, best results are seen in patients with solitary lesions and without carcinoma in situ or hydronephrosis.

After radiation therapy, approximately 50% of patients have dysuria and urinary frequency during treatment, which resolves several weeks after treatment, and 15% report acute toxic effects of the bowel.

Randomized trials that directly compare the bladder-preserving chemoradiation therapy approach with radical cystectomy have not been performed. The relative effectiveness of these two treatments is thus unknown.

Evidence (EBRT with or without concomitant chemotherapy):

TUR followed by chemoradiation therapy

1. A multicenter phase III trial randomly assigned 360 patients with muscle-invasive bladder cancer to radiation therapy with or without synchronous chemotherapy using fluorouracil and mitomycin.[26]
  - The 2-year locoregional DFS rate was higher in the chemoradiation therapy group (67% vs. 54%; HR, 0.68; 95% CI, 0.48–0.96; P = .03). The 5-year OS rate was 48% in the chemoradiation therapy group and 35% in the radiation therapy group, but the difference was not statistically significant (P = .16).
2. Similarly, synchronous chemoradiation therapy using other chemotherapy regimens, such as cisplatin alone or combined with fluorouracil, have reported 5-year OS rates of 50% to 60% and survival with an intact bladder in 40% to 45% of patients. These figures are higher than what has generally been reported in studies of radiation therapy alone.[27]

TUR followed by chemoradiation therapy

1. In some nonrandomized studies, 50% or more of the patients who underwent bladder-preserving therapy (i.e., initial TUR of as much tumor as possible followed by concurrent chemoradiation therapy) were alive at 5 years, and 75% of those survivors had an intact bladder.[28-30]

Radiation therapy and chemotherapy

1. A randomized controlled trial randomly assigned 99 patients with T2 to T4b urothelial carcinoma of the bladder to radiation therapy with or without three 14-day cycles of cisplatin (100 mg/m^2^ on day 1). Patients and their physicians chose whether the radiation therapy was definitive or given as precystectomy treatment.[31]
  - The pelvic relapse rate was reduced (multivariable regression model HR, 0.50; 90% CI, 0.29–0.86; P = .036) using concurrent cisplatin, but there was no difference in the occurrence of distant metastases or OS.
  - The reduction in pelvic relapse was similar in patients who received definitive radiation therapy and precystectomy radiation therapy.

Neoadjuvant chemotherapy followed by chemoradiation therapy

1. In a phase III study (RTOG-8903), the Radiation Therapy Oncology Group evaluated the potential benefit of adding two cycles of neoadjuvant methotrexate, cisplatin, and vinblastine before concurrent cisplatin and radiation therapy.[32]
  - Neoadjuvant chemotherapy was associated with increased hematologic toxic effects and yielded no improvement in response rate, freedom from distant metastases, or OS compared with chemoradiation therapy alone.

#### Segmental cystectomy (in selected patients)

Segmental cystectomy is appropriate only in very selected patients.[1] There are no randomized controlled trials comparing segmental cystectomy with radical cystectomy. Only patients with adenocarcinomas of the urachus are routinely treated with segmental cystectomy. These tumors typically are mucinous adenocarcinomas occurring at the dome of the bladder and are treated with an en bloc resection of the bladder dome and urachal remnant, including the umbilicus.[33-36]

#### TUR with fulguration (in selected patients)

TUR may control stage II bladder cancer in some patients. However, more aggressive forms of treatment are often dictated by recurrent tumor or by the large size, multiple foci, or undifferentiated grade of the neoplasm.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Richie JP: Surgery for invasive bladder cancer. Hematol Oncol Clin North Am 6 (1): 129-45, 1992.1556046 92210459
Advanced Bladder Cancer Meta-analysis Collaboration: Neoadjuvant chemotherapy in invasive bladder cancer: a systematic review and meta-analysis. Lancet 361 (9373): 1927-34, 2003.12801735 22686870
Sherif A, Holmberg L, Rintala E, et al.: Neoadjuvant cisplatinum based combination chemotherapy in patients with invasive bladder cancer: a combined analysis of two Nordic studies. Eur Urol 45 (3): 297-303, 2004.15036674
Winquist E, Kirchner TS, Segal R, et al.: Neoadjuvant chemotherapy for transitional cell carcinoma of the bladder: a systematic review and meta-analysis. J Urol 171 (2 Pt 1): 561-9, 2004.14713760
Olsson CA: Management of invasive carcinoma of the bladder. In: deKernion JB, Paulson DF, eds.: Genitourinary Cancer Management. Lea and Febiger, 1987, pp 59-94.
Stein JP, Lieskovsky G, Cote R, et al.: Radical cystectomy in the treatment of invasive bladder cancer: long-term results in 1,054 patients. J Clin Oncol 19 (3): 666-75, 2001.11157016
Madersbacher S, Hochreiter W, Burkhard F, et al.: Radical cystectomy for bladder cancer today--a homogeneous series without neoadjuvant therapy. J Clin Oncol 21 (4): 690-6, 2003.12586807
Manoharan M, Ayyathurai R, Soloway MS: Radical cystectomy for urothelial carcinoma of the bladder: an analysis of perioperative and survival outcome. BJU Int 104 (9): 1227-32, 2009.19519764
Ather MH, Fatima S, Sinanoglu O: Extent of lymphadenectomy in radical cystectomy for bladder cancer. World J Surg Oncol 3: 43, 2005.16022725
Hart S, Skinner EC, Meyerowitz BE, et al.: Quality of life after radical cystectomy for bladder cancer in patients with an ileal conduit, cutaneous or urethral kock pouch. J Urol 162 (1): 77-81, 1999.10379744
Miyao N, Adachi H, Sato Y, et al.: Recovery of sexual function after nerve-sparing radical prostatectomy or cystectomy. Int J Urol 8 (4): 158-64, 2001.11260347
Zippe CD, Raina R, Shah AD, et al.: Female sexual dysfunction after radical cystectomy: a new outcome measure. Urology 63 (6): 1153-7, 2004.15183970
Brendler CB, Steinberg GD, Marshall FF, et al.: Local recurrence and survival following nerve-sparing radical cystoprostatectomy. J Urol 144 (5): 1137-40; discussion 1140-1, 1990.2231885 91039537
Skinner DG, Boyd SD, Lieskovsky G: Clinical experience with the Kock continent ileal reservoir for urinary diversion. J Urol 132 (6): 1101-7, 1984.6502796 85058359
Fowler JE: Continent urinary reservoirs and bladder substitutes in the adult: part I. Monographs in Urology 8 (2): 1987.
Fowler JE: Continent urinary reservoirs and bladder substitutes in the adult: part II. Monographs in Urology 8 (3): 1987.
Figueroa AJ, Stein JP, Dickinson M, et al.: Radical cystectomy for elderly patients with bladder carcinoma: an updated experience with 404 patients. Cancer 83 (1): 141-7, 1998.9655304 98318010
Smith JA, Crawford ED, Paradelo JC, et al.: Treatment of advanced bladder cancer with combined preoperative irradiation and radical cystectomy versus radical cystectomy alone: a phase III intergroup study. J Urol 157 (3): 805-7; discussion 807-8, 1997.9072571 97188799
Powles T, Catto JWF, Galsky MD, et al.: Perioperative Durvalumab with Neoadjuvant Chemotherapy in Operable Bladder Cancer. N Engl J Med 391 (19): 1773-1786, 2024.39282910
Neoadjuvant cisplatin, methotrexate, and vinblastine chemotherapy for muscle-invasive bladder cancer: a randomised controlled trial. International collaboration of trialists. Lancet 354 (9178): 533-40, 1999.10470696 99397297
Griffiths G, Hall R, Sylvester R, et al.: International phase III trial assessing neoadjuvant cisplatin, methotrexate, and vinblastine chemotherapy for muscle-invasive bladder cancer: long-term results of the BA06 30894 trial. J Clin Oncol 29 (16): 2171-7, 2011.21502557
Grossman HB, Natale RB, Tangen CM, et al.: Neoadjuvant chemotherapy plus cystectomy compared with cystectomy alone for locally advanced bladder cancer. N Engl J Med 349 (9): 859-66, 2003.12944571
Leow JJ, Martin-Doyle W, Rajagopal PS, et al.: Adjuvant chemotherapy for invasive bladder cancer: a 2013 updated systematic review and meta-analysis of randomized trials. Eur Urol 66 (1): 42-54, 2014.24018020
Galsky MD, Witjes JA, Gschwend JE, et al.: Adjuvant Nivolumab in High-Risk Muscle-Invasive Urothelial Carcinoma: Expanded Efficacy From CheckMate 274. J Clin Oncol 43 (1): 15-21, 2025.39393026
Apolo AB, Ballman KV, Sonpavde G, et al.: Adjuvant Pembrolizumab versus Observation in Muscle-Invasive Urothelial Carcinoma. N Engl J Med 392 (1): 45-55, 2025.39282902
James ND, Hussain SA, Hall E, et al.: Radiotherapy with or without chemotherapy in muscle-invasive bladder cancer. N Engl J Med 366 (16): 1477-88, 2012.22512481
Efstathiou JA, Zietman AL, Kaufman DS, et al.: Bladder-sparing approaches to invasive disease. World J Urol 24 (5): 517-29, 2006.17082940
Kachnic LA, Kaufman DS, Heney NM, et al.: Bladder preservation by combined modality therapy for invasive bladder cancer. J Clin Oncol 15 (3): 1022-9, 1997.9060542 97213853
Housset M, Maulard C, Chretien Y, et al.: Combined radiation and chemotherapy for invasive transitional-cell carcinoma of the bladder: a prospective study. J Clin Oncol 11 (11): 2150-7, 1993.8229129 94045819
Rödel C, Grabenbauer GG, Kühn R, et al.: Combined-modality treatment and selective organ preservation in invasive bladder cancer: long-term results. J Clin Oncol 20 (14): 3061-71, 2002.12118019 22113127
Coppin CM, Gospodarowicz MK, James K, et al.: Improved local control of invasive bladder cancer by concurrent cisplatin and preoperative or definitive radiation. The National Cancer Institute of Canada Clinical Trials Group. J Clin Oncol 14 (11): 2901-7, 1996.8918486 97076169
Shipley WU, Winter KA, Kaufman DS, et al.: Phase III trial of neoadjuvant chemotherapy in patients with invasive bladder cancer treated with selective bladder preservation by combined radiation therapy and chemotherapy: initial results of Radiation Therapy Oncology Group 89-03. J Clin Oncol 16 (11): 3576-83, 1998.9817278 99032190
Ashley RA, Inman BA, Sebo TJ, et al.: Urachal carcinoma: clinicopathologic features and long-term outcomes of an aggressive malignancy. Cancer 107 (4): 712-20, 2006.16826585
Siefker-Radtke A: Urachal carcinoma: surgical and chemotherapeutic options. Expert Rev Anticancer Ther 6 (12): 1715-21, 2006.17181485
Herr HW, Bochner BH, Sharp D, et al.: Urachal carcinoma: contemporary surgical outcomes. J Urol 178 (1): 74-8; discussion 78, 2007.17499279
Bruins HM, Visser O, Ploeg M, et al.: The clinical epidemiology of urachal carcinoma: results of a large, population based study. J Urol 188 (4): 1102-7, 2012.22901574

## Treatment of Stage IV Bladder Cancer

Few patients with stage IV bladder cancer can be cured, and for many patients, the emphasis is on palliation of symptoms. The potential for cure is restricted to patients with stage IV disease with involvement of pelvic organs by direct extension or metastases to regional lymph nodes.[1]

### Treatment Options for Stage IV Bladder Cancer

#### Treatment options for patients with T4b, N0, M0 disease

Treatment options for patients with T4b, N0, M0 disease include:

1. Enfortumab vedotin plus pembrolizumab.
2. Chemotherapy plus immunotherapy.
3. Chemotherapy alone.
4. Systemic therapy followed by radical cystectomy.
5. External-beam radiation therapy (EBRT) with or without concomitant chemotherapy.
6. Urinary diversion or cystectomy for palliation.

##### Enfortumab vedotin plus pembrolizumab

Enfortumab vedotin is an antibody-drug conjugate, combining an antibody that binds to nectin-4 with a microtubule inhibitor. The U.S. Food and Drug Administration (FDA) approved enfortumab vedotin as monotherapy for patients with previously treated metastatic urothelial carcinoma. Pembrolizumab is an anti−programmed death-1 (PD-1) antibody that the FDA has approved as monotherapy for patients with metastatic bladder cancer. The combination of the two agents showed a promising response rate and duration of response, leading to a single-arm phase II trial and then a comparison with chemotherapy in a randomized, controlled, phase III trial.[2-4] While results cannot be extrapolated across trials, enfortumab vedotin plus pembrolizumab is a first-line therapy option for patients without a contraindication.

Evidence (enfortumab vedotin plus pembrolizumab):

1. In a phase III trial (EV-302 (https://www.cancer.gov/clinicaltrials/NCT04223856) [NCT04223856]), 886 patients were randomly assigned to receive either enfortumab vedotin plus pembrolizumab (n = 442) or gemcitabine plus either cisplatin or carboplatin (n = 444). The median follow-up was 17.2 months.[4][Level of evidence A1]
  - Overall survival (OS) and progression-free survival (PFS) were longer for patients in the enfortumab vedotin-plus-pembrolizumab arm than in the chemotherapy arm.
  - The median OS was 31.5 months for patients who received enfortumab vedotin plus pembrolizumab and 16.1 months for patients who received chemotherapy (hazard ratio [HR], 0.47; 95% confidence interval [CI], 0.38–0.58; P < .001).
  - PFS was 12.5 months for patients who received enfortumab vedotin plus pembrolizumab and 6.3 months for patients who received chemotherapy (HR, 0.45; 95% CI, 0.38–0.54; P < .001).
  - Grade 3 or higher adverse events occurred in 55.9% of patients who received enfortumab vedotin plus pembrolizumab and 69.5% of patients who received chemotherapy.
  - In the experimental arm, the most common high-grade adverse events were skin reactions, peripheral neuropathy, hyperglycemia, and neutropenia.

##### Chemotherapy plus immunotherapy

For many years, cisplatin-based chemotherapy was the standard-of-care first-line systemic treatment for patients with stage IV urothelial carcinoma who were eligible to receive cisplatin. A randomized, controlled, phase III trial reported longer OS when cisplatin-based chemotherapy was given with nivolumab, compared with chemotherapy alone.[5]

Evidence (chemotherapy plus immunotherapy):

1. A phase III, randomized controlled trial (CheckMate901 (https://www.cancer.gov/clinicaltrials/NCT03036098) [NCT03036098]) included 608 patients (304 to each arm). Patients were randomly assigned to receive either nivolumab plus gemcitabine and cisplatin or gemcitabine and cisplatin alone. Patients received up to six cycles of chemotherapy and up to 2 years of nivolumab. The median follow-up was 33.6 months.[5]
  - The median OS was 21.7 months for patients who received nivolumab and 18.9 months for patients who received chemotherapy alone (HR_death_, 0.78; 95% CI, 0.63–0.96; P = .02).[5][Level of evidence A1]
  - The median PFS was 7.9 months for patients who received nivolumab and 7.6 months for patients who received chemotherapy alone (HR_progression or death_, 0.72; 95% CI, 0.59–0.88; P = .001).
  - At 1 year, the PFS rate was 34.2% in the nivolumab arm and 21.8% in the chemotherapy-alone arm.
  - The overall response rate was 57.6% in the nivolumab arm and 21.7% in the chemotherapy-alone arm. The complete response rate was 21.7% in the nivolumab arm and 11.8% in the chemotherapy-alone arm.
  - The duration of complete response was 37.1 months in the nivolumab arm and 13.2 months in the chemotherapy-alone arm.
  - Grade 3 or higher adverse events occurred in 61.8% of patients in the nivolumab arm and 51.7% of patients in the chemotherapy-alone arm.

##### Chemotherapy alone

Cisplatin-based combination chemotherapy regimens are a standard-of-care option for patients with stage IV bladder cancer.[6-10] The only chemotherapy regimens that have been shown to result in longer survival in randomized controlled trials are methotrexate, vinblastine, doxorubicin, and cisplatin (MVAC); high-dose MVAC; and cisplatin, methotrexate, and vinblastine (CMV). Gemcitabine plus cisplatin (GC) was compared with MVAC in a randomized controlled trial that reported no difference in response rate or survival. Of note, patients with good performance status and lymph node–only disease have a low but significant rate of achieving a durable complete remission with MVAC or GC. For example, in a large, randomized controlled trial that compared MVAC with GC, the 5-year OS rate was 20.9% in patients with lymph node–only disease.[11]

Single-agent cisplatin and multiagent regimens that do not include cisplatin have never resulted in improved survival in a randomized controlled trial. For patients who are not candidates for cisplatin-based multiagent chemotherapy regimens, there is no regimen that has been shown to prolong survival. However, many regimens have demonstrated radiologically measurable responses.

These regimens include carboplatin plus paclitaxel,[12] carboplatin plus gemcitabine,[13-15] paclitaxel plus gemcitabine,[16-18] single-agent gemcitabine,[19,20] and single-agent paclitaxel.[21-23] Regimens of carboplatin, methotrexate, and vinblastine; carboplatin, epirubicin, methotrexate, and vinblastine; and paclitaxel, gemcitabine, and carboplatin have been studied but are not widely used.[24-27]

Evidence (chemotherapy alone):

1. Results from a randomized controlled trial that compared MVAC with docetaxel plus cisplatin in 220 patients reported that MVAC was associated with longer OS (median survival, 14.2 months vs. 9.3 months; P = .026).[28]
2. A randomized trial that compared MVAC with cisplatin, cyclophosphamide, and doxorubicin demonstrated improved response and median survival rates (48 weeks vs. 36 weeks; P = .003) with the MVAC regimen.[29]
3. Results from a randomized trial that compared MVAC with single-agent cisplatin in advanced bladder cancer also showed a significant advantage with MVAC in both response rate and median survival (12.5 months vs. 8.2 months; P = .002).[30]
4. A multicenter randomized controlled trial compared CMV with methotrexate plus vinblastine without cisplatin in 214 patients. The relative risk of dying was 0.68 (95% CI, 0.51–0.90; P = .0065) in favor of CMV. The median survival was 7 months with CMV and 4.5 months with methotrexate plus vinblastine.[31]
5. The European Organisation for Research and Treatment of Cancer (EORTC) conducted a randomized trial that included 263 patients with advanced bladder cancer. The study evaluated the efficacy of a high-dose intensity MVAC regimen given every 2 weeks with granulocyte colony-stimulating factor (G-CSF) versus a classic MVAC regimen given every 4 weeks.[32]
  - There was no significant difference in OS at a median follow-up of 3.2 years (HR, 0.80; 95% CI, 0.60–1.06; P = .122). However, at a median follow-up of 7.3 years, the high-dose intensity MVAC regimen was associated with improved OS (HR, 0.76; 95% CI, 0.58–0.99; P = .042), with a 5-year survival rate of 22% compared with 14% in patients treated with the classic MVAC regimen.
  - The high-dose intensity MVAC regimen was also associated with higher response rates (72% vs. 58%; P = .016), improved median PFS (9.5 months vs. 8.1 months; P = .017), and decreased neutropenic fever (10% vs. 26%; P < .001), although only 19% of patients treated with a classic MVAC regimen ever received G-CSF.[32][Level of evidence A1] An imbalance in baseline prognostic factors (i.e., visceral metastases were found in 37 patients randomly assigned to the high-dose MVAC regimen and 47 patients assigned to the classic MVAC regimen) may account, in part, for these results.
6. A multicenter, randomized, phase III trial compared GC with MVAC in 405 patients with advanced or metastatic bladder cancer.
  - GC yielded response rates, time-to-progression, and OS (HR, 1.04; 95% CI, 0.82–1.32; P = .75) similar to MVAC, but GC had a better safety profile and was better tolerated than MVAC.[33][Level of evidence A1]
  - Although this study was not designed to show the equivalence of the two regimens, the similar efficacy and reduced toxic effects of GC make it a reasonable alternative in patients who may not tolerate the MVAC regimen.

##### External-beam radiation therapy (EBRT) with or without concomitant chemotherapy

Definitive radiation therapy with or without concurrent chemotherapy, evaluated mainly in patients with locally advanced (T2–T4) disease, appears to have minimal curative potential in patients with regional lymph node metastases.[34,35] Patients with evidence of lymph node metastases have generally been excluded from phase III trials of radiation therapy.[36,37]

##### Urinary diversion or cystectomy for palliation

Urinary diversion may be indicated, not only for palliation of urinary symptoms but also for preservation of renal function in patients who are candidates for chemotherapy.

#### Treatment options for patients with any T, any N, M1 disease

Treatment options for patients with any T, any N, M1 disease include:

1. Enfortumab vedotin plus pembrolizumab.
2. Chemotherapy plus immunotherapy.
3. Chemotherapy alone or as an adjunct to local treatment.
4. Immunotherapy.
5. EBRT for palliation.
6. Urinary diversion or cystectomy for palliation.
7. Other chemotherapy agents with activity in metastatic bladder cancer, such as paclitaxel, docetaxel, and ifosfamide (under clinical evaluation).[38,39][Level of evidence C3]
8. Clinical trials.

##### Enfortumab vedotin plus pembrolizumab

Enfortumab vedotin is an antibody-drug conjugate, combining an antibody that binds to nectin-4 with a microtubule inhibitor. The FDA approved enfortumab vedotin as monotherapy for patients with previously treated metastatic urothelial carcinoma. Pembrolizumab is an anti–PD-1 antibody that has been approved as monotherapy for patients with metastatic bladder cancer. The combination of the two agents showed a promising response rate and duration of response, leading to a single-arm phase II trial and then a comparison with chemotherapy in a phase III, randomized controlled trial.[2-4] While results cannot be extrapolated across trials, enfortumab vedotin plus pembrolizumab is a first-line therapy option for patients without a contraindication.

Evidence (enfortumab vedotin plus pembrolizumab):

1. In a phase III trial (EV-302 (https://www.cancer.gov/clinicaltrials/NCT04223856) [NCT04223856]), 886 patients were randomly assigned to receive either enfortumab vedotin plus pembrolizumab (n = 442) or gemcitabine plus either cisplatin or carboplatin (n = 444). The median follow-up was 17.2 months.[4][Level of evidence A1]
  - OS and PFS were longer for patients in the enfortumab vedotin-plus-pembrolizumab arm than in the chemotherapy arm.
  - The median OS was 31.5 months for patients who received enfortumab vedotin plus pembrolizumab and 16.1 months for patients who received chemotherapy (HR, 0.47; 95% CI, 0.38–0.58; P < .001).
  - PFS was 12.5 months for patients who received enfortumab vedotin plus pembrolizumab and 6.3 months for patients who received chemotherapy (HR, 0.45; 95% CI, 0.38–0.54; P < .001).
  - Grade 3 or higher adverse events occurred in 55.9% of patients who received enfortumab vedotin plus pembrolizumab and 69.5% of patients who received chemotherapy.
  - In the experimental arm, the most common high-grade adverse events were skin reactions, peripheral neuropathy, hyperglycemia, and neutropenia.

##### Chemotherapy plus immunotherapy

For many years, cisplatin-based chemotherapy was the standard-of-care first-line systemic treatment for patients with stage IV urothelial carcinoma who were eligible to receive cisplatin. A randomized, controlled, phase III trial reported longer OS when cisplatin-based chemotherapy was given with nivolumab, compared with chemotherapy alone.[5]

Evidence (chemotherapy plus immunotherapy):

1. A phase III, randomized controlled trial (CheckMate901 (https://www.cancer.gov/clinicaltrials/NCT03036098) [NCT03036098]) included 608 patients (304 to each arm). Patients were randomly assigned to receive either nivolumab plus gemcitabine and cisplatin or gemcitabine and cisplatin alone. Patients received up to six cycles of chemotherapy and up to 2 years of nivolumab. The median follow-up was 33.6 months.[5]
  - The median OS was 21.7 months for patients who received nivolumab and 18.9 months for patients who received chemotherapy alone (HR_death_, 0.78; 95% CI, 0.63–0.96; P = .02).[5][Level of evidence A1]
  - The median PFS was 7.9 months for patients who received nivolumab and 7.6 months for patients who received chemotherapy alone (HR_progression or death_, 0.72; 95% CI, 0.59–0.88; P = .001).
  - At 1 year, the PFS rate was 34.2% in the nivolumab arm and 21.8% in the chemotherapy-alone arm.
  - The overall response rate was 57.6% in the nivolumab arm and 21.7% in the chemotherapy-alone arm. The complete response rate was 21.7% in the nivolumab arm and 11.8% in the chemotherapy-alone arm.
  - The duration of complete response was 37.1 months in the nivolumab arm and 13.2 months in the chemotherapy-alone arm.
  - Grade 3 or higher adverse events occurred in 61.8% of patients in the nivolumab arm and 51.7% of patients in the chemotherapy-alone arm.

##### Chemotherapy alone or as an adjunct to local treatment

Cisplatin-based combination chemotherapy regimens are the standard of care for first-line therapy for stage IV bladder cancer in patients who can tolerate it.[6-10] The only chemotherapy regimens that have been shown to result in longer survival in randomized controlled trials are MVAC, dose-dense MVAC, and CMV. GC was compared with MVAC in a randomized controlled trial and neither regimen was associated with a statistically significant difference in response rate or survival. The two regimens are generally considered equivalent, but they have never been compared in a noninferiority trial. Of note, patients with good performance status and lymph node–only disease have a low but significant rate of achieving a durable complete remission with MVAC or GC. For example, in a large, randomized controlled trial that compared MVAC with GC, the 5-year OS rate was 20.9% in patients with lymph node–only disease.[11] Dose-dense MVAC and standard-dose MVAC were compared in a randomized controlled trial, and dose-dense MVAC was associated with longer survival.

Single-agent cisplatin and multiagent regimens that do not include cisplatin have never resulted in improved survival in a randomized controlled trial. For patients who are not candidates for cisplatin-based multiagent chemotherapy regimens, there is no regimen that has been shown to prolong survival. However, many regimens have demonstrated radiologically measurable responses.

These regimens include carboplatin plus paclitaxel,[12] carboplatin plus gemcitabine,[13-15] paclitaxel plus gemcitabine,[16-18] single-agent gemcitabine,[19,20] and single-agent paclitaxel.[21-23] The regimens of carboplatin, methotrexate, and vinblastine; carboplatin, epirubicin, methotrexate, and vinblastine; and paclitaxel, gemcitabine, and carboplatin have been studied but are not widely used.[24-27]

Ongoing studies are evaluating new chemotherapy combinations.

Evidence (chemotherapy):

1. A prospective randomized trial that compared MVAC with cisplatin, cyclophosphamide, and doxorubicin demonstrated improved response rate and longer median survival (48 weeks vs. 36 weeks; P = .003) with the MVAC regimen.[29]
2. Results from a randomized trial that compared MVAC with single-agent cisplatin in advanced bladder cancer also showed a significant advantage with MVAC in both response rate and median survival (12.5 months vs. 8.2 months; P = .002).[30]
3. A multicenter randomized controlled trial compared CMV with methotrexate plus vinblastine without cisplatin in 214 patients. The relative risk of dying was 0.68 (95% CI, 0.51–0.90; P = .0065) in favor of CMV. The median survival was 7 months with CMV compared with 4.5 months for methotrexate plus vinblastine.[31]
4. The EORTC conducted a randomized trial that included 263 patients with advanced bladder cancer. The study evaluated the efficacy of a high-dose intensity MVAC regimen given every 2 weeks with G-CSF compared with a classic MVAC regimen given every 4 weeks.[32]
  - There was no significant difference in OS at a median follow-up of 3.2 years (HR, 0.80; 95% CI, 0.60–1.06; P = .122). However, at a median follow-up of 7.3 years, the high-dose intensity MVAC regimen was associated with improved OS (HR, 0.76; 95% CI, 0.58–0.99; P = .042), with a 5-year survival rate of 22%, compared with 14% in patients treated with the classic MVAC regimen.
  - The high-dose intensity MVAC regimen was also associated with higher response rates (72% vs. 58%; P = .016), improved median PFS (9.5 months vs. 8.1 months; P = .017), and decreased neutropenic fever (10% vs. 26%, P < .001), although only 19% of patients treated with a classic MVAC regimen ever received G-CSF.[32][Level of evidence A1] An imbalance in baseline prognostic factors (i.e., visceral metastases were found in 37 patients randomly assigned to the high-dose MVAC regimen and 47 patients assigned to the classic MVAC regimen) may account, in part, for these results.
5. A multicenter, randomized, phase III trial compared GC with MVAC in 405 patients with advanced or metastatic bladder cancer.
  - GC yielded response rates, time-to-progression, and OS (HR, 1.04; 95% CI, 0.82–1.32; P = .75) similar to MVAC, but GC had a better safety profile and was better tolerated than MVAC.[33][Level of evidence A1]
  - Although this study was not designed to show the equivalence of the two regimens, the similar efficacy and reduced toxic effects of GC make it a reasonable alternative in patients who may not tolerate the MVAC regimen.
6. Other chemotherapy regimens that have shown activity in metastatic bladder cancer include single-agent paclitaxel, single-agent gemcitabine, single-agent pemetrexed, carboplatin combined with either gemcitabine or paclitaxel, and gemcitabine combined with paclitaxel. There are no phase III trials demonstrating a survival or quality-of-life benefit from second-line chemotherapy.[13,16,18,19,27,40-52]

##### Immunotherapy

Immunotherapy has emerged as a treatment alternative for patients with stage IV bladder cancer. Anti−PD-1 or anti−programmed death-ligand 1 (PD-L1) immune checkpoint inhibitors have activity against urothelial carcinoma in patients who have previously been treated with, or who are ineligible for, platinum-based chemotherapy.[53-57] There are several approved agents. However, pembrolizumab has the most robust data in terms of level of evidence and survival rates.

###### Pembrolizumab

Pembrolizumab is a humanized monoclonal antibody that binds to PD-1. In patients previously treated with platinum-based chemotherapy, pembrolizumab has prolonged OS compared with second-line chemotherapy. As a result, the FDA approved pembrolizumab for patients with locally advanced or metastatic urothelial carcinoma who fall into one of the following three categories:

1. Cisplatin-ineligible and have tumors that express PD-L1 (combined positive score [CPS] of at least 10).
2. Cisplatin- and carboplatin-ineligible.
3. Progression of disease after treatment with platinum-based chemotherapy.

Evidence (pembrolizumab):

1. An open-label, international, randomized controlled, phase III trial (NCT02256436 (https://www.cancer.gov/clinicaltrials/NCT02256436)) included patients whose disease had progressed after treatment with platinum-based chemotherapy. Patients received pembrolizumab (200 mg intravenously [IV] every 21 days) or second-line chemotherapy (investigator’s choice of paclitaxel, docetaxel, or vinflunine).[58]
  - The median OS was longer with pembrolizumab (10.3 months vs. 7.4 months; HR, 0.73; 95% CI, 0.59–0.91).
  - In patients with a PD-L1 CPS of at least 10, the median OS was 8.0 months with pembrolizumab compared with 5.2 months of chemotherapy (HR, 0.57; 95% CI, 0.37–0.88).
  - The PFS rate at 12 months was 16.8% (95% CI, 12.3%–22.0%) in the pembrolizumab arm and 6.2% (95% CI, 3.3%–10.2%) in the chemotherapy arm.
  - The objective response rate was 21.1% in the pembrolizumab arm and 11.4% in the chemotherapy arm. Among those who responded, the median duration of response was longer than 18 months with pembrolizumab compared with a response of 4.3 months with chemotherapy.
  - Pembrolizumab was associated with a lower rate of treatment-related adverse events than chemotherapy (60.9% vs. 90.2%) and a lower rate of high-grade adverse events (15.0% vs. 49.4%). The most common adverse events with pembrolizumab were pruritus, fatigue, nausea, diarrhea, and decreased appetite.[58][Level of evidence A1]
2. A single-arm, phase II trial (NCT02335424 (https://www.cancer.gov/clinicaltrials/NCT02335424)) of pembrolizumab included 370 treatment-naïve, cisplatin-ineligible patients with locally advanced or metastatic urothelial carcinoma.[59]
  - The overall response rate was 29%. In patients with a PD-L1 CPS of at least 10, the overall response rate was 51%.[59][Level of evidence C3]
  - The median duration of response had not been reached. Eighty-two percent of responses lasted at least 6 months.
  - Ten percent of patients had a serious treatment-related adverse event, and one patient died of treatment-related adverse events. The most common high-grade adverse events were fatigue (2%), elevated alkaline phosphatase (1%), colitis (1%), and muscle weakness (1%).

###### Atezolizumab

Atezolizumab is a humanized monoclonal antibody that binds to PD-L1 and prevents it from binding to its receptors, PD-1 or B7-1. Atezolizumab was voluntarily withdrawn in 2022 as a first-line treatment option for locally advanced or metastatic urothelial cancer. The withdrawal was based on the results of the randomized IMvigor130 (https://www.cancer.gov/clinicaltrials/NCT02807636) trial (NCT02807636) which showed no significant difference in OS. No survival improvement was seen in two analyses: atezolizumab plus platinum-based chemotherapy (group A) versus placebo plus platinum-based chemotherapy (group C),[60][Level of evidence A1] and atezolizumab monotherapy (group B) versus group C.[61][Level of evidence A1]

The trials below examined the use of atezolizumab as a first-line therapy in cisplatin-eligible patients.

Evidence (atezolizumab):

1. A multicenter single-arm trial (NCT0108652 (https://www.cancer.gov/clinicaltrials/NCT02108652)) included 315 cisplatin-ineligible patients or patients who were previously treated with platinum-based chemotherapy and who had inoperable locally advanced or metastatic urothelial carcinoma. Patients received atezolizumab (1,200 mg IV every 21 days).[56][Level of evidence C2]
  - The overall response rate was 15%.
  - With a median follow-up of 11.7 months, 38 of 45 responders (84%) had an ongoing response.
  - The response rate was 27% in patients with PD-L1 expression of at least 5%, 10% in those with PD-L1 expression of 1% to 5%, and 8% in those with PD-L1 expression of less than 1%.
  - Grade 3 to 4 adverse events were reported in 16% of patients, and high-grade, immune-related adverse events were reported in 5% of patients.
2. Similarly, a study (NCT02108652 (https://www.cancer.gov/clinicaltrials/NCT02108652)) of 123 previously untreated patients with cisplatin-ineligible, locally advanced metastatic urothelial carcinoma who were treated with atezolizumab reported that at a median follow-up of 17.2 months, the objective response rate was 23%, and 9% had complete responses.[57][Level of evidence C2]
  - Of the 27 responses, 19 were ongoing at the time of data analysis. Median OS was 15.9 months.
  - High-grade adverse events were reported in 16% of patients, 8% of patients discontinued treatment because of the adverse events, and there was one treatment-related death.

###### Nivolumab

Nivolumab is a fully human immunoglobulin G4 PD-1 immune checkpoint inhibitor antibody that blocks interaction between PD-L1 and PD-L2 with PD-1. There are no published controlled trials and thus no data regarding whether nivolumab results in longer survival or improved quality of life.

Evidence (nivolumab):

1. A multicenter trial (NCT01928394 (https://www.cancer.gov/clinicaltrials/NCT01928394)) included 86 patients with metastatic urothelial carcinoma whose disease progressed after platinum-based chemotherapy. Patients received nivolumab (3 mg/kg IV every 2 weeks).[55][Level of evidence B4]
  - With a minimum follow-up of 9 months and a median follow-up of 15 months, 24% of patients had an objective response, and 22% had grade 3 or 4 adverse events.
  - The most common adverse events were elevated lipase or amylase, fatigue, rash, dyspnea, lymphopenia, and neutropenia.
2. Another multicenter study (NCT02387996 (https://www.cancer.gov/clinicaltrials/NCT02387996)) of 270 patients with locally advanced or metastatic urothelial carcinoma that had progressed after treatment with platinum-based chemotherapy reported an objective response rate of 20%.[54][Level of evidence B4]
  - When evaluated by PD-L1 expression, the objective response rate was 28% in those with PD-L1 expression of 5% or greater; 24% in those with PD-L1 expression of 1% or greater; and 16% in those with PD-L1 expression of less than 1%.
  - Grade 3 to 4 adverse events were reported in 18% of patients.
  - There were three treatment-related deaths.

###### Avelumab

Avelumab is a monoclonal anti–PD-L1 antibody that has shown activity against urothelial carcinoma. A randomized controlled trial reported an OS benefit from maintenance avelumab when given after platinum-based chemotherapy in patients whose cancer did not progress during chemotherapy.

Evidence (avelumab):

1. A phase III study (NCT02603432 (https://www.cancer.gov/clinicaltrials/NCT02603432)) evaluated maintenance avelumab (10 mg/kg IV every 14 days) in patients with metastatic urothelial carcinoma who had not progressed during treatment with first-line chemotherapy with gemcitabine combined with either cisplatin or carboplatin. After four to six cycles of chemotherapy, 700 patients were randomly assigned to receive either best supportive care (control arm) or best supportive care plus maintenance avelumab (avelumab arm).[62][Level of evidence A1]
  - The 1-year OS rate was 71.3% in the avelumab arm compared with 58.4% in the control arm (HR, 0.69; 95% CI, 0.56–0.86).
  - The OS benefit was limited to patients whose tumors were PD-L1 positive. The OS in patients with PD-L1–negative tumors was not significantly different between the two arms.
  - Patients with PD-L1–positive tumors had a 1-year OS rate of 79.1% in the avelumab arm and 60.4% in the control arm (HR, 0.56; 95% CI, 0.40–0.79).
  - In the overall study population, the median PFS was 3.7 months for patients in the avelumab arm and 2.0 months for patients in the control arm (HR, 0.62; 95% CI, 0.52–0.75). In patients with PD-L1–positive tumors, the median PFS was 5.7 months with avelumab and 2.1 months with best supportive care alone (HR, 0.56; 95% CI, 0.43–0.73).
  - Grade 3 or higher adverse events were reported for 47.4% of patients in the avelumab arm and 25.2% of patients in the control arm. Most adverse events with avelumab were immune related, and 9% of patients who received avelumab were treated with high-dose glucocorticoids for these events.
2. A study (NCT01772004 (https://www.cancer.gov/clinicaltrials/NCT01772004)) of avelumab (10 mg/kg IV every 14 days) included 249 patients with metastatic urothelial carcinoma who had progressed after treatment with platinum-based chemotherapy.[63,64][Level of evidence C3]
  - Among the 161 patients with at least 6 months of follow-up, the overall response rate was 17%, and response was ongoing in 23 of 28 responders with a median follow-up of 7.3 months. Six percent of the patients had a complete response.
  - The overall response rate was 25.0% in patients with PD-L1 expression of at least 5% and 14.7% for those with less than 5% PD-L1 positivity.
  - Median PFS was 6.3 weeks; 23% of the patients were progression free at 24 weeks.
  - A treatment-related adverse event was reported in 66.7% of patients, including 8.4% of patients with high-grade adverse events. There was one treatment-related death from pneumonitis. High-grade immune-related adverse events were reported in 2.4% of patients.

###### Durvalumab

Durvalumab is an anti–PD-L1 monoclonal antibody with activity when given perioperatively with neoadjuvant chemotherapy in patients with resectable disease. However, durvalumab was voluntarily withdrawn in 2021 as a first-line therapy for locally advanced or metastatic urothelial cancer. The withdrawal was based on the randomized DANUBE (https://www.cancer.gov/clinicaltrials/NCT02516241) trial (NCT02516241) which showed no significant improvement in OS.[65][Level of evidence A1]

##### EBRT for palliation

Definitive radiation therapy with or without concurrent chemotherapy, evaluated mainly in patients with locally advanced (T2–T4) disease, appears to have minimal curative potential in patients with regional lymph node metastases.

##### Urinary diversion or cystectomy for palliation

Urinary diversion may be indicated, not only for palliation of urinary symptoms, but also for preservation of renal function in candidates for chemotherapy.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Vieweg J, Gschwend JE, Herr HW, et al.: The impact of primary stage on survival in patients with lymph node positive bladder cancer. J Urol 161 (1): 72-6, 1999.10037372 99154976
Hoimes CJ, Flaig TW, Milowsky MI, et al.: Enfortumab Vedotin Plus Pembrolizumab in Previously Untreated Advanced Urothelial Cancer. J Clin Oncol 41 (1): 22-31, 2023.36041086
O'Donnell PH, Milowsky MI, Petrylak DP, et al.: Enfortumab Vedotin With or Without Pembrolizumab in Cisplatin-Ineligible Patients With Previously Untreated Locally Advanced or Metastatic Urothelial Cancer. J Clin Oncol 41 (25): 4107-4117, 2023.37369081
Powles T, Valderrama BP, Gupta S, et al.: Enfortumab Vedotin and Pembrolizumab in Untreated Advanced Urothelial Cancer. N Engl J Med 390 (10): 875-888, 2024.38446675
van der Heijden MS, Sonpavde G, Powles T, et al.: Nivolumab plus Gemcitabine-Cisplatin in Advanced Urothelial Carcinoma. N Engl J Med 389 (19): 1778-1789, 2023.37870949
Kachnic LA, Kaufman DS, Heney NM, et al.: Bladder preservation by combined modality therapy for invasive bladder cancer. J Clin Oncol 15 (3): 1022-9, 1997.9060542 97213853
Tester W, Porter A, Asbell S, et al.: Combined modality program with possible organ preservation for invasive bladder carcinoma: results of RTOG protocol 85-12. Int J Radiat Oncol Biol Phys 25 (5): 783-90, 1993.8478228 93239542
Logothetis CJ, Johnson DE, Chong C, et al.: Adjuvant chemotherapy of bladder cancer: a preliminary report. J Urol 139 (6): 1207-11, 1988.3373589 88230634
Skinner DG, Daniels JR, Russell CA, et al.: The role of adjuvant chemotherapy following cystectomy for invasive bladder cancer: a prospective comparative trial. J Urol 145 (3): 459-64; discussion 464-7, 1991.1997689 91148108
Scher HI: Chemotherapy for invasive bladder cancer: neoadjuvant versus adjuvant. Semin Oncol 17 (5): 555-65, 1990.2218568 91019499
von der Maase H, Sengelov L, Roberts JT, et al.: Long-term survival results of a randomized trial comparing gemcitabine plus cisplatin, with methotrexate, vinblastine, doxorubicin, plus cisplatin in patients with bladder cancer. J Clin Oncol 23 (21): 4602-8, 2005.16034041
Vaishampayan UN, Faulkner JR, Small EJ, et al.: Phase II trial of carboplatin and paclitaxel in cisplatin-pretreated advanced transitional cell carcinoma: a Southwest Oncology Group study. Cancer 104 (8): 1627-32, 2005.16138364
Carles J, Nogué M: Gemcitabine/carboplatin in advanced urothelial cancer. Semin Oncol 28 (3 Suppl 10): 19-24, 2001.11510030
Linardou H, Aravantinos G, Efstathiou E, et al.: Gemcitabine and carboplatin combination as first-line treatment in elderly patients and those unfit for cisplatin-based chemotherapy with advanced bladder carcinoma: Phase II study of the Hellenic Co-operative Oncology Group. Urology 64 (3): 479-84, 2004.15351574
De Santis M, Bellmunt J, Mead G, et al.: Randomized phase II/III trial assessing gemcitabine/ carboplatin and methotrexate/carboplatin/vinblastine in patients with advanced urothelial cancer "unfit" for cisplatin-based chemotherapy: phase II--results of EORTC study 30986. J Clin Oncol 27 (33): 5634-9, 2009.19786668
Sternberg CN, Calabrò F, Pizzocaro G, et al.: Chemotherapy with an every-2-week regimen of gemcitabine and paclitaxel in patients with transitional cell carcinoma who have received prior cisplatin-based therapy. Cancer 92 (12): 2993-8, 2001.11753976
Kaufman DS, Carducci MA, Kuzel TM, et al.: A multi-institutional phase II trial of gemcitabine plus paclitaxel in patients with locally advanced or metastatic urothelial cancer. Urol Oncol 22 (5): 393-7, 2004 Sep-Oct.15464919
Calabrò F, Lorusso V, Rosati G, et al.: Gemcitabine and paclitaxel every 2 weeks in patients with previously untreated urothelial carcinoma. Cancer 115 (12): 2652-9, 2009.19396817
Stadler WM, Kuzel T, Roth B, et al.: Phase II study of single-agent gemcitabine in previously untreated patients with metastatic urothelial cancer. J Clin Oncol 15 (11): 3394-8, 1997.9363871
Lorusso V, Pollera CF, Antimi M, et al.: A phase II study of gemcitabine in patients with transitional cell carcinoma of the urinary tract previously treated with platinum. Italian Co-operative Group on Bladder Cancer. Eur J Cancer 34 (8): 1208-12, 1998.9849481
Roth BJ, Dreicer R, Einhorn LH, et al.: Significant activity of paclitaxel in advanced transitional-cell carcinoma of the urothelium: a phase II trial of the Eastern Cooperative Oncology Group. J Clin Oncol 12 (11): 2264-70, 1994.7525883 95054245
Dreicer R, Gustin DM, See WA, et al.: Paclitaxel in advanced urothelial carcinoma: its role in patients with renal insufficiency and as salvage therapy. J Urol 156 (5): 1606-8, 1996.8863548
Vaughn DJ, Broome CM, Hussain M, et al.: Phase II trial of weekly paclitaxel in patients with previously treated advanced urothelial cancer. J Clin Oncol 20 (4): 937-40, 2002.11844814 21833560
Bellmunt J, Albanell J, Gallego OS, et al.: Carboplatin, methotrexate, and vinblastine in patients with bladder cancer who were ineligible for cisplatin-based chemotherapy. Cancer 70 (7): 1974-9, 1992.1525774
Bellmunt J, Ribas A, Albanell J, et al.: M-CAVI, a neoadjuvant carboplatin-based regimen for the treatment of T2-4N0M0 carcinoma of the bladder. Am J Clin Oncol 19 (4): 344-8, 1996.8677901
Skarlos DV, Aravantinos G, Linardou E, et al.: Chemotherapy with methotrexate, vinblastine, epirubicin and carboplatin (Carbo-MVE) in transitional cell urothelial cancer. A Hellenic Co-Operative Oncology Group study. Eur Urol 31 (4): 420-7, 1997.9187901
Hainsworth JD, Meluch AA, Litchy S, et al.: Paclitaxel, carboplatin, and gemcitabine in the treatment of patients with advanced transitional cell carcinoma of the urothelium. Cancer 103 (11): 2298-303, 2005.15856431
Bamias A, Aravantinos G, Deliveliotis C, et al.: Docetaxel and cisplatin with granulocyte colony-stimulating factor (G-CSF) versus MVAC with G-CSF in advanced urothelial carcinoma: a multicenter, randomized, phase III study from the Hellenic Cooperative Oncology Group. J Clin Oncol 22 (2): 220-8, 2004.14665607
Logothetis CJ, Dexeus FH, Finn L, et al.: A prospective randomized trial comparing MVAC and CISCA chemotherapy for patients with metastatic urothelial tumors. J Clin Oncol 8 (6): 1050-5, 1990.2189954 90270904
Loehrer PJ, Einhorn LH, Elson PJ, et al.: A randomized comparison of cisplatin alone or in combination with methotrexate, vinblastine, and doxorubicin in patients with metastatic urothelial carcinoma: a cooperative group study. J Clin Oncol 10 (7): 1066-73, 1992.1607913 92300408
Mead GM, Russell M, Clark P, et al.: A randomized trial comparing methotrexate and vinblastine (MV) with cisplatin, methotrexate and vinblastine (CMV) in advanced transitional cell carcinoma: results and a report on prognostic factors in a Medical Research Council study. MRC Advanced Bladder Cancer Working Party. Br J Cancer 78 (8): 1067-75, 1998.9792152 99006638
Sternberg CN, de Mulder P, Schornagel JH, et al.: Seven year update of an EORTC phase III trial of high-dose intensity M-VAC chemotherapy and G-CSF versus classic M-VAC in advanced urothelial tract tumours. Eur J Cancer 42 (1): 50-4, 2006.16330205
von der Maase H, Hansen SW, Roberts JT, et al.: Gemcitabine and cisplatin versus methotrexate, vinblastine, doxorubicin, and cisplatin in advanced or metastatic bladder cancer: results of a large, randomized, multinational, multicenter, phase III study. J Clin Oncol 18 (17): 3068-77, 2000.11001674
Jahnson S, Pedersen J, Westman G: Bladder carcinoma--a 20-year review of radical irradiation therapy. Radiother Oncol 22 (2): 111-7, 1991.1957001 92066754
Coppin CM, Gospodarowicz MK, James K, et al.: Improved local control of invasive bladder cancer by concurrent cisplatin and preoperative or definitive radiation. The National Cancer Institute of Canada Clinical Trials Group. J Clin Oncol 14 (11): 2901-7, 1996.8918486 97076169
Shipley WU, Winter KA, Kaufman DS, et al.: Phase III trial of neoadjuvant chemotherapy in patients with invasive bladder cancer treated with selective bladder preservation by combined radiation therapy and chemotherapy: initial results of Radiation Therapy Oncology Group 89-03. J Clin Oncol 16 (11): 3576-83, 1998.9817278 99032190
James ND, Hussain SA, Hall E, et al.: Radiotherapy with or without chemotherapy in muscle-invasive bladder cancer. N Engl J Med 366 (16): 1477-88, 2012.22512481
Raghavan D, Huben R: Management of bladder cancer. Curr Probl Cancer 19 (1): 1-64, 1995 Jan-Feb.7768113 95285691
Sweeney CJ, Roth BJ, Kabbinavar FF, et al.: Phase II study of pemetrexed for second-line treatment of transitional cell cancer of the urothelium. J Clin Oncol 24 (21): 3451-7, 2006.16849761
Vaughn DJ, Malkowicz SB, Zoltick B, et al.: Paclitaxel plus carboplatin in advanced carcinoma of the urothelium: an active and tolerable outpatient regimen. J Clin Oncol 16 (1): 255-60, 1998.9440750 98101700
Zielinski CC, Schnack B, Grbovic M, et al.: Paclitaxel and carboplatin in patients with metastatic urothelial cancer: results of a phase II trial. Br J Cancer 78 (3): 370-4, 1998.9703285
Bajorin DF, McCaffrey JA, Dodd PM, et al.: Ifosfamide, paclitaxel, and cisplatin for patients with advanced transitional cell carcinoma of the urothelial tract: final report of a phase II trial evaluating two dosing schedules. Cancer 88 (7): 1671-8, 2000.10738226
Carles J, Nogué M, Domènech M, et al.: Carboplatin-gemcitabine treatment of patients with transitional cell carcinoma of the bladder and impaired renal function. Oncology 59 (1): 24-7, 2000.10895062
Dreicer R, Manola J, Roth BJ, et al.: Phase II study of cisplatin and paclitaxel in advanced carcinoma of the urothelium: an Eastern Cooperative Oncology Group Study. J Clin Oncol 18 (5): 1058-61, 2000.10694557 20160751
Hussain M, Vaishampayan U, Du W, et al.: Combination paclitaxel, carboplatin, and gemcitabine is an active treatment for advanced urothelial cancer. J Clin Oncol 19 (9): 2527-33, 2001.11331332
Meluch AA, Greco FA, Burris HA, et al.: Paclitaxel and gemcitabine chemotherapy for advanced transitional-cell carcinoma of the urothelial tract: a phase II trial of the Minnie Pearl cancer research network. J Clin Oncol 19 (12): 3018-24, 2001.11408496
Albers P, Siener R, Härtlein M, et al.: Gemcitabine monotherapy as second-line treatment in cisplatin-refractory transitional cell carcinoma - prognostic factors for response and improvement of quality of life. Onkologie 25 (1): 47-52, 2002.11893883
Li J, Juliar B, Yiannoutsos C, et al.: Weekly paclitaxel and gemcitabine in advanced transitional-cell carcinoma of the urothelium: a phase II Hoosier Oncology Group study. J Clin Oncol 23 (6): 1185-91, 2005.15718315
Lorusso V, Crucitta E, Silvestris N, et al.: Randomised, open-label, phase II trial of paclitaxel, gemcitabine and cisplatin versus gemcitabine and cisplatin as first-line chemotherapy in advanced transitional cell carcinoma of the urothelium. Oncol Rep 13 (2): 283-7, 2005.15643512
Fechner G, Siener R, Reimann M, et al.: Randomised phase II trial of gemcitabine and paclitaxel second-line chemotherapy in patients with transitional cell carcinoma (AUO Trial AB 20/99). Int J Clin Pract 60 (1): 27-31, 2006.16409425
Galsky MD, Mironov S, Iasonos A, et al.: Phase II trial of pemetrexed as second-line therapy in patients with metastatic urothelial carcinoma. Invest New Drugs 25 (3): 265-70, 2007.17146733
Chee CE, Jett JR, Bernath AM, et al.: Phase 2 trial of pemetrexed disodium and carboplatin in previously untreated extensive-stage small cell lung cancer, N0423. Cancer 116 (10): 2382-9, 2010.20209614
Plimack ER, Bellmunt J, Gupta S, et al.: Safety and activity of pembrolizumab in patients with locally advanced or metastatic urothelial cancer (KEYNOTE-012): a non-randomised, open-label, phase 1b study. Lancet Oncol 18 (2): 212-220, 2017.28081914
Sharma P, Retz M, Siefker-Radtke A, et al.: Nivolumab in metastatic urothelial carcinoma after platinum therapy (CheckMate 275): a multicentre, single-arm, phase 2 trial. Lancet Oncol 18 (3): 312-322, 2017.28131785
Sharma P, Callahan MK, Bono P, et al.: Nivolumab monotherapy in recurrent metastatic urothelial carcinoma (CheckMate 032): a multicentre, open-label, two-stage, multi-arm, phase 1/2 trial. Lancet Oncol 17 (11): 1590-1598, 2016.27733243
Rosenberg JE, Hoffman-Censits J, Powles T, et al.: Atezolizumab in patients with locally advanced and metastatic urothelial carcinoma who have progressed following treatment with platinum-based chemotherapy: a single-arm, multicentre, phase 2 trial. Lancet 387 (10031): 1909-20, 2016.26952546
Balar AV, Galsky MD, Rosenberg JE, et al.: Atezolizumab as first-line treatment in cisplatin-ineligible patients with locally advanced and metastatic urothelial carcinoma: a single-arm, multicentre, phase 2 trial. Lancet 389 (10064): 67-76, 2017.27939400
Bellmunt J, de Wit R, Vaughn DJ, et al.: Pembrolizumab as Second-Line Therapy for Advanced Urothelial Carcinoma. N Engl J Med 376 (11): 1015-1026, 2017.28212060
Balar AV, Castellano D, O'Donnell PH, et al.: First-line pembrolizumab in cisplatin-ineligible patients with locally advanced and unresectable or metastatic urothelial cancer (KEYNOTE-052): a multicentre, single-arm, phase 2 study. Lancet Oncol 18 (11): 1483-1492, 2017.28967485
Grande E, Arranz JÁ, De Santis M, et al.: Atezolizumab plus chemotherapy versus placebo plus chemotherapy in untreated locally advanced or metastatic urothelial carcinoma (IMvigor130): final overall survival analysis results from a randomised, controlled, phase 3 study. Lancet Oncol 25 (1): 29-45, 2024.38101433
Bamias A, Davis ID, Galsky MD, et al.: Atezolizumab monotherapy versus chemotherapy in untreated locally advanced or metastatic urothelial carcinoma (IMvigor130): final overall survival analysis from a randomised, controlled, phase 3 study. Lancet Oncol 25 (1): 46-61, 2024.38101431
Powles T, Park SH, Voog E, et al.: Avelumab Maintenance Therapy for Advanced or Metastatic Urothelial Carcinoma. N Engl J Med 383 (13): 1218-1230, 2020.32945632
Apolo AB, Ellerton JA, Infante JR, et al.: Updated efficacy and safety of avelumab in metastatic urothelial carcinoma (mUC): pooled analysis from 2 cohorts of the phase 1b Javelin solid tumor study. [Abstract] J Clin Oncol 35 (Suppl 15): A-4529, 2017.
Patel MR, Ellerton J, Infante JR, et al.: Avelumab in metastatic urothelial carcinoma after platinum failure (JAVELIN Solid Tumor): pooled results from two expansion cohorts of an open-label, phase 1 trial. Lancet Oncol 19 (1): 51-64, 2018.29217288
Powles T, van der Heijden MS, Castellano D, et al.: Durvalumab alone and durvalumab plus tremelimumab versus chemotherapy in previously untreated patients with unresectable, locally advanced or metastatic urothelial carcinoma (DANUBE): a randomised, open-label, multicentre, phase 3 trial. Lancet Oncol 21 (12): 1574-1588, 2020.32971005

## Treatment of Recurrent Bladder Cancer

The prognosis for any patient with progressive or recurrent invasive bladder cancer is generally poor. Management of recurrence depends on previous therapy, sites of recurrence, and individual patient considerations.

### Treatment Options for Recurrent Bladder Cancer

Treatment options for patients with recurrent bladder cancer include:

1. Combination chemotherapy.
2. Immunotherapy.
3. Targeted therapy.
4. Surgery for new superficial or localized tumors.
5. Palliative therapy.
6. Clinical trials.

#### Combination chemotherapy

Patients who have not received previous chemotherapy for urothelial carcinoma should consider chemotherapy as described above for stage IV disease.

In patients with recurrent transitional cell carcinoma, combination chemotherapy has produced high response rates, with occasional complete responses seen.[1,2]

Cisplatin-based combination chemotherapy regimens are the standard of care for first-line therapy for stage IV bladder cancer in patients who can tolerate it.[3-7] The only chemotherapy regimens that have been shown to result in longer survival in randomized controlled trials are MVAC (methotrexate, vinblastine, doxorubicin, and cisplatin), dose-dense MVAC, and CMV (cisplatin, methotrexate, and vinblastine).

GC (gemcitabine and cisplatin) was compared with MVAC in a randomized controlled trial, and neither regimen was associated with a statistically significant difference in response rate or survival. The two regimens are generally considered equivalent, but they have never been compared in a noninferiority trial. Of note, patients with good performance status and lymph node–only disease have a low but significant rate of achieving a durable complete remission with MVAC or GC. For example, in a large, randomized controlled trial comparing MVAC with GC, the 5-year overall survival (OS) rate was 20.9% in patients with lymph node–only disease.[8] Dose-dense MVAC and standard-dose MVAC were compared in a randomized controlled trial, and dose-dense MVAC was associated with longer survival.

Single-agent cisplatin and multiagent regimens that do not include cisplatin have never resulted in improved survival in a randomized controlled trial. For patients who are not candidates for cisplatin-based multiagent chemotherapy regimens, there is no regimen that has been shown to prolong survival. However, many regimens have demonstrated radiologically measurable responses.

These regimens include carboplatin plus paclitaxel,[9] carboplatin plus gemcitabine,[10-12] paclitaxel plus gemcitabine,[13-15] single-agent gemcitabine,[16,17] and single-agent paclitaxel.[18-20] The regimens of carboplatin, methotrexate, and vinblastine; carboplatin, epirubicin, methotrexate, and vinblastine; and paclitaxel, gemcitabine, and carboplatin have been studied but are not widely used.[21-24]

Evidence (combination chemotherapy):

1. In a prospective randomized trial that compared MVAC with cisplatin, cyclophosphamide, and doxorubicin, the MVAC regimen demonstrated improved response rate and longer median survival (48 weeks vs. 36 weeks; P = .003).[25]
2. Results from a randomized trial that compared MVAC with single-agent cisplatin in advanced bladder cancer also showed a significant advantage with MVAC in both response rate and median survival (12.5 months vs. 8.2 months; P = .002).[26]
3. A multicenter randomized controlled trial compared CMV with methotrexate plus vinblastine without cisplatin in 214 patients.[27]
  - The relative risk of dying was 0.68 (95% confidence interval [CI], 0.51–0.90; P = .0065) in favor of CMV.
  - The median survival was 7 months with CMV compared with 4.5 months for methotrexate plus vinblastine.
4. The European Organisation for Research and Treatment of Cancer (EORTC) conducted a randomized trial that included 263 patients with advanced bladder cancer. The study evaluated the efficacy of a high-dose intensity MVAC regimen given every 2 weeks with granulocyte colony-stimulating factor (G-CSF) versus a classic MVAC regimen given every 4 weeks.[28]
  - Although there was no significant difference in OS at a median follow-up of 3.2 years (hazard ratio [HR], 0.80; 95% CI, 0.60–1.06; P = .122), an update at a median follow-up of 7.3 years reported that the high-dose intensity MVAC regimen was associated with improved OS (HR, 0.76; 95% CI, 0.58–0.99; P = .042), with a 5-year survival rate of 22% compared with 14% in patients treated with the classic MVAC regimen.
  - The high-dose intensity MVAC regimen was also associated with higher response rates (72% vs. 58%; P = .016), improved median progression-free survival (PFS) (9.5 months vs. 8.1 months; P = .017), and decreased neutropenic fever (10% vs. 26%; P < .001), although only 19% of patients treated with a classic MVAC regimen ever received G-CSF.[28][Level of evidence A1] An imbalance in baseline prognostic factors (i.e., visceral metastases were found in 37 patients randomly assigned to the high-dose MVAC regimen and 47 patients assigned to the classic MVAC regimen) may account, in part, for these results.
5. A multicenter, randomized, phase III trial compared GC with MVAC in 405 patients with advanced or metastatic bladder cancer.
  - GC yielded response rates, time-to-progression, and OS (HR, 1.04; 95% CI, 0.82–1.32; P = .75) similar to MVAC, but GC had a better safety profile and was better tolerated than MVAC.[29][Level of evidence A1]
  Although this study was not designed to show the equivalence of the two regimens, the similar efficacy and reduced toxic effects of GC make it a reasonable alternative in patients who may not tolerate the MVAC regimen.
6. Other chemotherapy regimens that have shown activity in metastatic bladder cancer include single-agent paclitaxel, single-agent gemcitabine, single-agent pemetrexed, carboplatin combined with either gemcitabine or paclitaxel, and gemcitabine combined with paclitaxel. There are no phase III trials demonstrating a survival or quality-of-life benefit from second-line chemotherapy.[30-37]

#### Immunotherapy

Immunotherapy has emerged as a treatment alternative for patients with recurrent bladder cancer. Anti−programmed death-1 (PD-1) or anti−programmed death-ligand 1 (PD-L1) immune checkpoint inhibitors have activity against urothelial carcinoma in patients who have previously been treated with, or who are ineligible for, cisplatin-based chemotherapy.[38-42] There are several approved agents. However, pembrolizumab has the most robust data in terms of level of evidence and survival.

##### Pembrolizumab

Pembrolizumab is a humanized monoclonal antibody that binds to PD-1. In patients previously treated with platinum-based chemotherapy, pembrolizumab has prolonged OS compared with second-line chemotherapy. As a result, the U.S. Food and Drug Administration (FDA) approved pembrolizumab for patients with locally advanced or metastatic urothelial carcinoma who fall into one of the following three categories:

1. Cisplatin-ineligible and have tumors that express PD-L1 (combined positive score [CPS] of at least 10).
2. Cisplatin- and carboplatin-ineligible.
3. Progression of disease after treatment with platinum-based chemotherapy.

Evidence (pembrolizumab):

1. An open-label, international, phase III, randomized controlled trial (NCT02256436 (https://www.cancer.gov/clinicaltrials/NCT02256436)) included patients whose disease had progressed after treatment with platinum-based chemotherapy. Patients received pembrolizumab (200 mg intravenously [IV] every 21 days) or second-line chemotherapy (investigator’s choice of paclitaxel, docetaxel, or vinflunine).[43]
  - The median OS was longer with pembrolizumab (10.3 months vs.7.4 months; HR, 0.73; 95% CI, 0.59–0.91).
  - In patients with a PD-L1 CPS of at least 10, median OS was 8.0 months with pembrolizumab compared with 5.2 months of chemotherapy (HR, 0.57; 95% CI, 0.37–0.88).
  - The PFS rate at 12 months was 16.8% (95% CI, 12.3%–22.0%) in the pembrolizumab arm and 6.2% (95% CI, 3.3%–10.2%) in the chemotherapy arm.
  - The objective response rate was 21.1% in the pembrolizumab arm and 11.4% in the chemotherapy arm. Among those who responded, the median duration of response was longer than 18 months with pembrolizumab compared with a response of 4.3 months with chemotherapy.
  - Pembrolizumab was associated with a lower rate of treatment-related adverse events than chemotherapy (60.9% vs. 90.2%) and a lower rate of high-grade adverse events (15.0% vs. 49.4%). The most common adverse events with pembrolizumab were pruritus, fatigue, nausea, diarrhea, and decreased appetite.[43][Level of evidence A1]
2. A single-arm phase II trial (NCT02335424 (https://www.cancer.gov/clinicaltrials/NCT02335424)) of pembrolizumab included 370 treatment-naïve, cisplatin-ineligible patients with locally advanced or metastatic urothelial carcinoma.[44]
  - The overall response rate was 29%. In patients with a PD-L1 CPS of at least 10, the overall response rate was 51%.
  - The median duration of response had not been reached. Eighty-two percent of responses lasted at least 6 months.
  - Ten percent of patients had a serious treatment-related adverse event, and one patient died of treatment-related adverse events. The most common high-grade adverse events were fatigue (2%), elevated alkaline phosphatase (1%), colitis (1%), and muscle weakness (1%).[44][Level of evidence C3]

##### Atezolizumab

Atezolizumab is a humanized monoclonal antibody that binds to PD-L1 and prevents it from binding to its receptors PD-1 or B7-1. Atezolizumab was voluntarily withdrawn in 2022 as a first-line treatment option for locally advanced or metastatic urothelial cancer. The withdrawal was based on the results of the randomized IMvigor130 (https://www.cancer.gov/clinicaltrials/NCT02807636) trial (NCT02807636) which showed no significant difference in OS.[45][Level of evidence A1]; [46][Level of evidence A1] Atezolizumab has been studied as a second-line therapy after platinum-based chemotherapy.

Evidence (atezolizumab):

1. The IMvigor211 (https://www.cancer.gov/clinicaltrials/NCT02302807) trial (NCT02302807) is a randomized controlled trial that compared atezolizumab with second-line chemotherapy (docetaxel, paclitaxel, or vinflunine) in 931 patients with locally advanced or metastatic urothelial carcinoma who were previously treated with platinum-containing chemotherapy.[47] The trial design specified that OS would be primarily assessed in patients with PD-L1 expression of at least 5%.
  - The median OS was 11.1 months for atezolizumab versus 10.6 months for chemotherapy in patients with PD-L1 expression of at least 5% (P = .41).[47][Level of evidence A1]
  - Response rates were also similar: 23% with atezolizumab and 22% with chemotherapy.
  - Patients receiving atezolizumab had a lower rate of high-grade toxicity (20% vs. 43%) and a lower rate of treatment discontinuation resulting from adverse events (7% vs. 18%).

##### Nivolumab

Nivolumab is a fully human immunoglobulin G4 PD-1 immune checkpoint inhibitor antibody that blocks interaction between PD-L1 and PD-L2 with PD-1. There are no published controlled trials and thus no data regarding whether nivolumab results in longer survival or improved quality of life.

Evidence (nivolumab):

1. A multicenter trial (NCT01928394 (https://www.cancer.gov/clinicaltrials/NCT01928394)) included 86 patients with metastatic urothelial carcinoma whose disease progressed after platinum-based chemotherapy. Patients received nivolumab (3 mg/kg IV every 2 weeks).[40][Level of evidence B4]
  - With a minimum follow-up of 9 months and a median follow-up of 15 months, 24% had an objective response, and 22% had grade 3 or 4 adverse events.
  - The most common adverse events were elevated lipase or amylase, fatigue, rash, dyspnea, lymphopenia, and neutropenia.
2. Another multicenter study (NCT02387996 (https://www.cancer.gov/clinicaltrials/NCT02387996)) of 270 patients with locally advanced or metastatic urothelial carcinoma that had progressed after treatment with platinum-based chemotherapy reported an objective response rate of 20%.[39][Level of evidence B4]
  - When evaluated by PD-L1 expression, the objective response rate was 28% in those with PD-L1 expression of 5% or greater; 24% in those with PD-L1 expression of 1% or greater; and 16% in those with PD-L1 expression of less than 1%.
  - Grade 3 to 4 adverse events were reported in 18% of patients.
  - There were three treatment-related deaths.

##### Avelumab

Avelumab is a monoclonal anti–PD-L1 antibody that has shown activity against urothelial carcinoma. A randomized controlled trial reported an OS benefit from maintenance avelumab when given after platinum-based chemotherapy in patients whose cancer did not progress during chemotherapy.

Evidence (avelumab):

1. A phase III study (NCT02603432 (https://www.cancer.gov/clinicaltrials/NCT02603432)) evaluated maintenance avelumab (10 mg/kg IV every 14 days) in patients with metastatic urothelial carcinoma who had not progressed during treatment with first-line chemotherapy with gemcitabine combined with either cisplatin or carboplatin. After four to six cycles of chemotherapy, 700 patients were randomly assigned to receive either best supportive care (control arm) or best supportive care plus maintenance avelumab (avelumab arm).[48][Level of evidence A1]
  - The 1-year OS rate was 71.3% in the avelumab arm compared with 58.4% in the control arm (HR, 0.69; 95% CI, 0.56–0.86).
  - The OS benefit was limited to patients whose tumors were PD-L1-positive. The OS in patients with PD-L1–negative tumors was not significantly different between the two arms.
  - Patients with PD-L1–positive tumors had a 1-year OS rate of 79.1% in the avelumab arm and 60.4% in the control arm (HR, 0.56; 95% CI, 0.40–0.79).
  - In the overall study population, the median PFS was 3.7 months for patients in the avelumab arm and 2.0 months for patients in the control arm (HR, 0.62; 95% CI, 0.52–0.75). In patients with PD-L1–positive tumors, the median PFS was 5.7 months with avelumab and 2.1 months with best supportive care alone (HR, 0.56; 95% CI, 0.43–0.73).
  - Grade 3 or higher adverse events were reported for 47.4% of patients in the avelumab arm and 25.2% of patients in the control arm. Most adverse events with avelumab were immune related, and 9% of patients who received avelumab were treated with high-dose glucocorticoids for these events.
2. A study (NCT01772004 (https://www.cancer.gov/clinicaltrials/NCT01772004)) of avelumab (10 mg/kg IV every 14 days) in 249 patients with metastatic urothelial carcinoma who had progressed after treatment with platinum-based chemotherapy reported the following results:[49,50][Level of evidence C3]
  - Among the 161 patients with at least 6 months of follow-up, the overall response rate was 17%, and response was ongoing in 23 of 28 responders with a median follow-up of 7.3 months. Six percent of the patients had a complete response.
  - The overall response rate was 25.0% in patients with PD-L1 expression of at least 5% and 14.7% for those with PD-L1 expression of less than 5%.
  - The median progression-free survival was 6.3 weeks; 23% of the patients were progression free at 24 weeks.
  - A treatment-related adverse event was reported in 66.7% of patients, including 8.4% of patients with high-grade adverse events. There was one treatment-related death from pneumonitis. High-grade immune-related adverse events were reported in 2.4% of patients.

##### Durvalumab

Durvalumab is an anti–PD-L1 monoclonal antibody with activity when given perioperatively with neoadjuvant chemotherapy in patients with resectable disease. However, durvalumab was voluntarily withdrawn in 2021 as a first-line therapy for locally advanced or metastatic urothelial cancer. The withdrawal was based on the randomized DANUBE (https://www.cancer.gov/clinicaltrials/NCT02516241) trial (NCT02516241) which showed no significant improvement in OS.[51][Level of evidence A1]

Durvalumab was assessed as second-line therapy after platinum-based chemotherapy or for cisplatin-eligible patients.

Evidence (durvalumab):

1. The efficacy of durvalumab (10 mg/kg IV every 14 days) was assessed in a study (NCT01693562 (https://www.cancer.gov/clinicaltrials/NCT01693562)) of 191 patients with locally advanced or metastatic urothelial carcinoma whose disease had progressed while they were on chemotherapy or who were either ineligible for or unwilling to be treated with chemotherapy.[52][Level of evidence C3]
  - With a median follow-up of 5.78 months, the overall response rate was 17.8%.
  - The response rate was 27.6% in patients with high expression of PD-L1 compared with 5.1% in patients with low or no PD-L1 expression.
  - High-grade adverse events were reported in 6.8% of patients, including 2.1% with high-grade immune-mediated adverse events.

#### Targeted therapy

##### Ramucirumab

Ramucirumab is an immunoglobulin G1 monoclonal antibody that blocks the vascular endothelial growth factor receptor-2 (VEGFR-2). The FDA approved ramucirumab for patients with gastric carcinoma and gastroesophageal junction adenocarcinoma, but not for patients with bladder cancer.

Evidence (ramucirumab):

1. Docetaxel chemotherapy plus ramucirumab was compared with docetaxel plus placebo in a double-blind, multicenter, randomized controlled phase III trial in 530 patients with metastatic urothelial carcinoma that had progressed after treatment with platinum-based chemotherapy. Forty-five patients (8.5%) had previously been treated with immunotherapy.[53][Level of evidence B1]
  - OS was not significantly different between the two arms.
  - The median PFS was 1.3 months (39 days) longer in the ramucirumab arm compared with the placebo arm (4.1 months vs. 2.8 months; HR, 0.696; 95% CI, 0.573–0.845, P = .0002).
  - The overall response rate was 26% in the ramucirumab arm and 14% in the placebo arm.
  - Treatment was discontinued because of adverse events in 19% of patients who received docetaxel plus ramucirumab and 8% of patients who received docetaxel plus placebo.
  - Grade 3 or higher adverse events were reported in 48% of patients in the ramucirumab arm and 41% of patients in the placebo arm. Adverse events included febrile neutropenia, epistaxis, hypertension, hematuria, and proteinuria. Sepsis occurred in 2% of patients who received ramucirumab, and no patients who received placebo.

##### Enfortumab vedotin

Enfortumab vedotin is a type of targeted therapy called an antibody-drug conjugate. Antibody-drug conjugates consist of a monoclonal antibody chemically linked to a drug. The monoclonal antibody part of enfortumab vedotin binds to a protein called nectin-4, which is found on the surface of most bladder cancer cells. The antibody is chemically linked to monomethyl auristatin E, or MMAE, a type of chemotherapy drug called a microtubule inhibitor. Once the conjugate is taken up by cells, the drug stops them from dividing and leads to their death.

The FDA approved enfortumab vedotin for patients with metastatic urothelial carcinoma that has progressed after treatment with both platinum-based first-line chemotherapy and second-line therapy with an immune checkpoint inhibitor. The approval was based on a single-arm trial of 125 patients with metastatic urothelial carcinoma.[54]

Evidence (enfortumab vedotin):

1. In a single-arm trial, 125 patients with metastatic urothelial carcinoma were treated with enfortumab vedotin.[54]
  - There was a 44% overall response rate and a 12% complete response rate.
  - The median duration of response was 7.6 months.
  - Adverse events included fatigue (50%), peripheral neuropathy (50%), alopecia (49%), rash (48%), decreased appetite (44%), and dysgeusia (40%).
  Because there was no control arm, this study could not demonstrate an improvement in OS or quality of life. A follow-up phase III trial is under way to assess the benefits of this medication.

##### Erdafitinib

Erdafitinib (JNJ-42756493) is a potent FGFR 1–4 tyrosine kinase inhibitor. The FDA approved erdafitinib for patients with urothelial carcinoma and a variant in one of the four FGFR genes and disease that has progressed after prior chemotherapy.

Roughly 20% of metastatic urothelial carcinomas of the bladder have FGFR variants, as do 35% of urothelial carcinomas of the ureters and renal pelvis.

Evidence (erdafitinib):

1. A phase II trial included patients with metastatic urothelial carcinoma whose disease had progressed during or after systemic chemotherapy.[55] To be eligible for the study, patients were required to have tumors with an FGFR3 variant or an FGFR2::FGFR3 gene fusion. The trial was originally designed as a randomized phase II trial comparing continuous with intermittent treatment, but after an interim safety analysis, the trial was converted to a single-arm study of continuous treatment with dose escalation. The published analysis focuses on this latter phase of the study, referred to as the “selected-regimen group.” The selected-regimen group consisted of 99 patients, 74 with an FGFR3 variant and 25 with an FGFR2::FGFR3 gene fusion.
  - The response rate by independent radiological review was 34%.
  - The response rate was higher among the patients with FGFR3 variants than among the patients with FGFR2::FGFR3 gene fusions.
  - Grade 3 adverse events that affected at least 10% of patients included stomatitis and hyponatremia. The most common adverse events of any grade were hypophosphatemia (77%), stomatitis (58%), diarrhea (51%), dry mouth (46%), decreased appetite (38%), and dysgeusia (37%).
2. A randomized controlled trial (THOR (https://www.cancer.gov/clinicaltrials/NCT03390504) [NCT03390504]) included 266 patients with locally advanced or metastatic urothelial carcinoma who had received anti–PD-1 or anti–PD-L1 therapy. Patients had FGFR2 or FGFR3 pathogenic variants or gene fusions. The study compared erdafitinib with chemotherapy.[56][Level of evidence A1]
  - At a median follow-up of 15.9 months, the OS was 12.1 months in the erdafitinib arm and 7.8 months in the chemotherapy arm (HR, 0.64; 95% CI, 0.47–0.88).
  - The median PFS was 5.6 months in the erdafitinib arm and 2.7 months in the chemotherapy arm (HR, 0.58; 95% CI, 0.44–0.78).
  - Grade 3 or higher treatment-related adverse events occurred in 45.9% of patients in the erdafitinib arm and 46.4% of patients in the chemotherapy arm. The most common grade 3 or higher events were hand-foot syndrome (9.6%), stomatitis (8.1%), onycholysis (5.9%), and hyperphosphatemia (5.2%) in the erdafitinib arm and neutropenia (14.3%) in the chemotherapy arm.
  - Erdafitinib caused central serous retinopathy (CSR) of any grade in 17.0% of patients. CSR was grade 3 or higher in 2.2% of patients, which is consistent with prior safety data. Monthly ophthalmological examinations are recommended for the first 4 months of treatment and then every 3 months thereafter, as CSR may necessitate dose interruptions, dose reductions, and, sometimes, permanent erdafitinib discontinuation.

#### Surgery for new superficial or localized tumors

For information about the treatment of new superficial or locally invasive tumors that develop in patients who received previous conservative therapy for superficial bladder neoplasia, see the Treatment Options for Stage I Bladder Cancer section.

#### Palliative therapy

Patients with symptomatic tumors should consider palliative radiation therapy.

#### Clinical trials

Recurrent or progressive disease in distant sites or after definitive local therapy has an extremely poor prognosis, and patients should consider clinical trials whenever possible.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Sternberg CN, Yagoda A, Scher HI, et al.: Methotrexate, vinblastine, doxorubicin, and cisplatin for advanced transitional cell carcinoma of the urothelium. Efficacy and patterns of response and relapse. Cancer 64 (12): 2448-58, 1989.2819654 90058402
Harker WG, Meyers FJ, Freiha FS, et al.: Cisplatin, methotrexate, and vinblastine (CMV): an effective chemotherapy regimen for metastatic transitional cell carcinoma of the urinary tract. A Northern California Oncology Group study. J Clin Oncol 3 (11): 1463-70, 1985.4056840 86036353
Kachnic LA, Kaufman DS, Heney NM, et al.: Bladder preservation by combined modality therapy for invasive bladder cancer. J Clin Oncol 15 (3): 1022-9, 1997.9060542 97213853
Tester W, Porter A, Asbell S, et al.: Combined modality program with possible organ preservation for invasive bladder carcinoma: results of RTOG protocol 85-12. Int J Radiat Oncol Biol Phys 25 (5): 783-90, 1993.8478228 93239542
Logothetis CJ, Johnson DE, Chong C, et al.: Adjuvant chemotherapy of bladder cancer: a preliminary report. J Urol 139 (6): 1207-11, 1988.3373589 88230634
Skinner DG, Daniels JR, Russell CA, et al.: The role of adjuvant chemotherapy following cystectomy for invasive bladder cancer: a prospective comparative trial. J Urol 145 (3): 459-64; discussion 464-7, 1991.1997689 91148108
Scher HI: Chemotherapy for invasive bladder cancer: neoadjuvant versus adjuvant. Semin Oncol 17 (5): 555-65, 1990.2218568 91019499
von der Maase H, Sengelov L, Roberts JT, et al.: Long-term survival results of a randomized trial comparing gemcitabine plus cisplatin, with methotrexate, vinblastine, doxorubicin, plus cisplatin in patients with bladder cancer. J Clin Oncol 23 (21): 4602-8, 2005.16034041
Vaishampayan UN, Faulkner JR, Small EJ, et al.: Phase II trial of carboplatin and paclitaxel in cisplatin-pretreated advanced transitional cell carcinoma: a Southwest Oncology Group study. Cancer 104 (8): 1627-32, 2005.16138364
Carles J, Nogué M: Gemcitabine/carboplatin in advanced urothelial cancer. Semin Oncol 28 (3 Suppl 10): 19-24, 2001.11510030
Linardou H, Aravantinos G, Efstathiou E, et al.: Gemcitabine and carboplatin combination as first-line treatment in elderly patients and those unfit for cisplatin-based chemotherapy with advanced bladder carcinoma: Phase II study of the Hellenic Co-operative Oncology Group. Urology 64 (3): 479-84, 2004.15351574
De Santis M, Bellmunt J, Mead G, et al.: Randomized phase II/III trial assessing gemcitabine/ carboplatin and methotrexate/carboplatin/vinblastine in patients with advanced urothelial cancer "unfit" for cisplatin-based chemotherapy: phase II--results of EORTC study 30986. J Clin Oncol 27 (33): 5634-9, 2009.19786668
Sternberg CN, Calabrò F, Pizzocaro G, et al.: Chemotherapy with an every-2-week regimen of gemcitabine and paclitaxel in patients with transitional cell carcinoma who have received prior cisplatin-based therapy. Cancer 92 (12): 2993-8, 2001.11753976
Kaufman DS, Carducci MA, Kuzel TM, et al.: A multi-institutional phase II trial of gemcitabine plus paclitaxel in patients with locally advanced or metastatic urothelial cancer. Urol Oncol 22 (5): 393-7, 2004 Sep-Oct.15464919
Calabrò F, Lorusso V, Rosati G, et al.: Gemcitabine and paclitaxel every 2 weeks in patients with previously untreated urothelial carcinoma. Cancer 115 (12): 2652-9, 2009.19396817
Stadler WM, Kuzel T, Roth B, et al.: Phase II study of single-agent gemcitabine in previously untreated patients with metastatic urothelial cancer. J Clin Oncol 15 (11): 3394-8, 1997.9363871
Lorusso V, Pollera CF, Antimi M, et al.: A phase II study of gemcitabine in patients with transitional cell carcinoma of the urinary tract previously treated with platinum. Italian Co-operative Group on Bladder Cancer. Eur J Cancer 34 (8): 1208-12, 1998.9849481
Roth BJ, Dreicer R, Einhorn LH, et al.: Significant activity of paclitaxel in advanced transitional-cell carcinoma of the urothelium: a phase II trial of the Eastern Cooperative Oncology Group. J Clin Oncol 12 (11): 2264-70, 1994.7525883 95054245
Dreicer R, Gustin DM, See WA, et al.: Paclitaxel in advanced urothelial carcinoma: its role in patients with renal insufficiency and as salvage therapy. J Urol 156 (5): 1606-8, 1996.8863548
Vaughn DJ, Broome CM, Hussain M, et al.: Phase II trial of weekly paclitaxel in patients with previously treated advanced urothelial cancer. J Clin Oncol 20 (4): 937-40, 2002.11844814 21833560
Bellmunt J, Albanell J, Gallego OS, et al.: Carboplatin, methotrexate, and vinblastine in patients with bladder cancer who were ineligible for cisplatin-based chemotherapy. Cancer 70 (7): 1974-9, 1992.1525774
Bellmunt J, Ribas A, Albanell J, et al.: M-CAVI, a neoadjuvant carboplatin-based regimen for the treatment of T2-4N0M0 carcinoma of the bladder. Am J Clin Oncol 19 (4): 344-8, 1996.8677901
Skarlos DV, Aravantinos G, Linardou E, et al.: Chemotherapy with methotrexate, vinblastine, epirubicin and carboplatin (Carbo-MVE) in transitional cell urothelial cancer. A Hellenic Co-Operative Oncology Group study. Eur Urol 31 (4): 420-7, 1997.9187901
Hainsworth JD, Meluch AA, Litchy S, et al.: Paclitaxel, carboplatin, and gemcitabine in the treatment of patients with advanced transitional cell carcinoma of the urothelium. Cancer 103 (11): 2298-303, 2005.15856431
Logothetis CJ, Dexeus FH, Finn L, et al.: A prospective randomized trial comparing MVAC and CISCA chemotherapy for patients with metastatic urothelial tumors. J Clin Oncol 8 (6): 1050-5, 1990.2189954 90270904
Loehrer PJ, Einhorn LH, Elson PJ, et al.: A randomized comparison of cisplatin alone or in combination with methotrexate, vinblastine, and doxorubicin in patients with metastatic urothelial carcinoma: a cooperative group study. J Clin Oncol 10 (7): 1066-73, 1992.1607913 92300408
Mead GM, Russell M, Clark P, et al.: A randomized trial comparing methotrexate and vinblastine (MV) with cisplatin, methotrexate and vinblastine (CMV) in advanced transitional cell carcinoma: results and a report on prognostic factors in a Medical Research Council study. MRC Advanced Bladder Cancer Working Party. Br J Cancer 78 (8): 1067-75, 1998.9792152 99006638
Sternberg CN, de Mulder P, Schornagel JH, et al.: Seven year update of an EORTC phase III trial of high-dose intensity M-VAC chemotherapy and G-CSF versus classic M-VAC in advanced urothelial tract tumours. Eur J Cancer 42 (1): 50-4, 2006.16330205
von der Maase H, Hansen SW, Roberts JT, et al.: Gemcitabine and cisplatin versus methotrexate, vinblastine, doxorubicin, and cisplatin in advanced or metastatic bladder cancer: results of a large, randomized, multinational, multicenter, phase III study. J Clin Oncol 18 (17): 3068-77, 2000.11001674
Roth BJ: Preliminary experience with paclitaxel in advanced bladder cancer. Semin Oncol 22 (3 Suppl 6): 1-5, 1995.7541150 95320570
Witte RS, Elson P, Bono B, et al.: Eastern Cooperative Oncology Group phase II trial of ifosfamide in the treatment of previously treated advanced urothelial carcinoma. J Clin Oncol 15 (2): 589-93, 1997.9053481 97178748
Einhorn LH, Roth BJ, Ansari R, et al.: Phase II trial of vinblastine, ifosfamide, and gallium combination chemotherapy in metastatic urothelial carcinoma. J Clin Oncol 12 (11): 2271-6, 1994.7525884 95054246
Pollera CF, Ceribelli A, Crecco M, et al.: Weekly gemcitabine in advanced bladder cancer: a preliminary report from a phase I study. Ann Oncol 5 (2): 182-4, 1994.8186164 94242680
Seidman AD, Scher HI, Heinemann MH, et al.: Continuous infusion gallium nitrate for patients with advanced refractory urothelial tract tumors. Cancer 68 (12): 2561-5, 1991.1933802 92034616
Roth BJ: Ifosfamide in the treatment of bladder cancer. Semin Oncol 23 (3 Suppl 6): 50-5, 1996.8677450 96279708
Bajorin DF: Paclitaxel in the treatment of advanced urothelial cancer. Oncology (Huntingt) 14 (1): 43-52, 57; discussion 58, 61-2, 2000.10680149 20144401
Sweeney CJ, Roth BJ, Kabbinavar FF, et al.: Phase II study of pemetrexed for second-line treatment of transitional cell cancer of the urothelium. J Clin Oncol 24 (21): 3451-7, 2006.16849761
Plimack ER, Bellmunt J, Gupta S, et al.: Safety and activity of pembrolizumab in patients with locally advanced or metastatic urothelial cancer (KEYNOTE-012): a non-randomised, open-label, phase 1b study. Lancet Oncol 18 (2): 212-220, 2017.28081914
Sharma P, Retz M, Siefker-Radtke A, et al.: Nivolumab in metastatic urothelial carcinoma after platinum therapy (CheckMate 275): a multicentre, single-arm, phase 2 trial. Lancet Oncol 18 (3): 312-322, 2017.28131785
Sharma P, Callahan MK, Bono P, et al.: Nivolumab monotherapy in recurrent metastatic urothelial carcinoma (CheckMate 032): a multicentre, open-label, two-stage, multi-arm, phase 1/2 trial. Lancet Oncol 17 (11): 1590-1598, 2016.27733243
Rosenberg JE, Hoffman-Censits J, Powles T, et al.: Atezolizumab in patients with locally advanced and metastatic urothelial carcinoma who have progressed following treatment with platinum-based chemotherapy: a single-arm, multicentre, phase 2 trial. Lancet 387 (10031): 1909-20, 2016.26952546
Balar AV, Galsky MD, Rosenberg JE, et al.: Atezolizumab as first-line treatment in cisplatin-ineligible patients with locally advanced and metastatic urothelial carcinoma: a single-arm, multicentre, phase 2 trial. Lancet 389 (10064): 67-76, 2017.27939400
Bellmunt J, de Wit R, Vaughn DJ, et al.: Pembrolizumab as Second-Line Therapy for Advanced Urothelial Carcinoma. N Engl J Med 376 (11): 1015-1026, 2017.28212060
Balar AV, Castellano D, O'Donnell PH, et al.: First-line pembrolizumab in cisplatin-ineligible patients with locally advanced and unresectable or metastatic urothelial cancer (KEYNOTE-052): a multicentre, single-arm, phase 2 study. Lancet Oncol 18 (11): 1483-1492, 2017.28967485
Grande E, Arranz JÁ, De Santis M, et al.: Atezolizumab plus chemotherapy versus placebo plus chemotherapy in untreated locally advanced or metastatic urothelial carcinoma (IMvigor130): final overall survival analysis results from a randomised, controlled, phase 3 study. Lancet Oncol 25 (1): 29-45, 2024.38101433
Bamias A, Davis ID, Galsky MD, et al.: Atezolizumab monotherapy versus chemotherapy in untreated locally advanced or metastatic urothelial carcinoma (IMvigor130): final overall survival analysis from a randomised, controlled, phase 3 study. Lancet Oncol 25 (1): 46-61, 2024.38101431
Powles T, Durán I, van der Heijden MS, et al.: Atezolizumab versus chemotherapy in patients with platinum-treated locally advanced or metastatic urothelial carcinoma (IMvigor211): a multicentre, open-label, phase 3 randomised controlled trial. Lancet 391 (10122): 748-757, 2018.29268948
Powles T, Park SH, Voog E, et al.: Avelumab Maintenance Therapy for Advanced or Metastatic Urothelial Carcinoma. N Engl J Med 383 (13): 1218-1230, 2020.32945632
Apolo AB, Ellerton JA, Infante JR, et al.: Updated efficacy and safety of avelumab in metastatic urothelial carcinoma (mUC): pooled analysis from 2 cohorts of the phase 1b Javelin solid tumor study. [Abstract] J Clin Oncol 35 (Suppl 15): A-4529, 2017.
Patel MR, Ellerton J, Infante JR, et al.: Avelumab in metastatic urothelial carcinoma after platinum failure (JAVELIN Solid Tumor): pooled results from two expansion cohorts of an open-label, phase 1 trial. Lancet Oncol 19 (1): 51-64, 2018.29217288
Powles T, van der Heijden MS, Castellano D, et al.: Durvalumab alone and durvalumab plus tremelimumab versus chemotherapy in previously untreated patients with unresectable, locally advanced or metastatic urothelial carcinoma (DANUBE): a randomised, open-label, multicentre, phase 3 trial. Lancet Oncol 21 (12): 1574-1588, 2020.32971005
Powles T, O'Donnell PH, Massard C, et al.: Efficacy and Safety of Durvalumab in Locally Advanced or Metastatic Urothelial Carcinoma: Updated Results From a Phase 1/2 Open-label Study. JAMA Oncol 3 (9): e172411, 2017.28817753
Petrylak DP, de Wit R, Chi KN, et al.: Ramucirumab plus docetaxel versus placebo plus docetaxel in patients with locally advanced or metastatic urothelial carcinoma after platinum-based therapy (RANGE): overall survival and updated results of a randomised, double-blind, phase 3 trial. Lancet Oncol 21 (1): 105-120, 2020.31753727
Rosenberg JE, O'Donnell PH, Balar AV, et al.: Pivotal Trial of Enfortumab Vedotin in Urothelial Carcinoma After Platinum and Anti-Programmed Death 1/Programmed Death Ligand 1 Therapy. J Clin Oncol 37 (29): 2592-2600, 2019.31356140
Loriot Y, Necchi A, Park SH, et al.: Erdafitinib in Locally Advanced or Metastatic Urothelial Carcinoma. N Engl J Med 381 (4): 338-348, 2019.31340094
Loriot Y, Matsubara N, Park SH, et al.: Erdafitinib or Chemotherapy in Advanced or Metastatic Urothelial Carcinoma. N Engl J Med 389 (21): 1961-1971, 2023.37870920

## Latest Updates to This Summary (05/02/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment Option Overview for Bladder Cancer

Revised Table 7, Treatment Options for Bladder Cancer, to include neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy as a treatment option for stages II and III bladder cancer.

Treatment of Stages II and III Bladder Cancer

Added Neoadjuvant chemoimmunotherapy followed by radical cystectomy followed by adjuvant immunotherapy as a new subsection.

Revised text about the results of a randomized controlled trial that compared nivolumab with placebo in 709 patients with pathological T3, T4, or node-positive muscle-invasive urothelial carcinoma who had undergone radical cystectomy (cited Galsky et al. as reference 24 and level of evidence A1).

Added text about a randomized controlled trial that compared adjuvant pembrolizumab with observation in 702 patients. Patients had undergone radical cystectomy and had positive margins, node-positive disease, and either pathological T2 or higher stage disease (if neoadjuvant cisplatin-based chemotherapy was received) or T3 or higher disease (if no neoadjuvant chemotherapy had been received) (cited Apolo et al. as reference 25 and level of evidence B1).

Treatment of Stage IV Bladder Cancer

Revised text in the Treatment options for patients with T4b, N0, M0 disease and Treatment options for patients with any T, any N, M1 disease subsections about the results of a phase III trial of 886 patients who were randomly assigned to receive either enfortumab vedotin plus pembrolizumab or gemcitabine plus either cisplatin or carboplatin (cited 2024 Powles et al. as reference 4 and level of evidence A1).

Revised text to state that atezolizumab was voluntarily withdrawn in 2022 as a first-line treatment option for locally advanced or metastatic urothelial cancer. The withdrawal was based on the results of the randomized IMvigor130 trial which showed no significant difference in two overall survival (OS) analyses (cited Grande et al. as reference 60 and Bamias et al. as reference 61, both level of evidence A1).

Revised text to state that durvalumab is an anti–programmed death-ligand 1 (PD-L1) monoclonal antibody with activity when given perioperatively with neoadjuvant chemotherapy in patients with resectable disease. However, durvalumab was voluntarily withdrawn in 2021 as a first-line therapy for locally advanced or metastatic urothelial cancer. The withdrawal was based on the randomized DANUBE trial which showed no significant improvement in OS (cited 2020 Powles et al. as reference 65 and level of evidence A1).

Treatment of Recurrent Bladder Cancer

Revised text to state that atezolizumab was voluntarily withdrawn in 2022 as a first-line treatment option for locally advanced or metastatic urothelial cancer. The withdrawal was based on the results of the randomized IMvigor130 trial which showed no significant difference in OS (cited Grande et al. as reference 45 and Bamias et al. as reference 46, both level of evidence A1).

Revised text to state that durvalumab is an anti–PD-L1 monoclonal antibody with activity when given perioperatively with neoadjuvant chemotherapy in patients with resectable disease. However, durvalumab was voluntarily withdrawn in 2021 as a first-line therapy for locally advanced or metastatic urothelial cancer. The withdrawal was based on the randomized DANUBE trial which showed no significant improvement in OS (cited Powles et al. as reference 51 and level of evidence A1).

Added text about a randomized controlled trial of 266 patients with locally advanced or metastatic urothelial carcinoma who had received anti–programmed death-1 or anti–PD-L1 therapy. Patients had FGFR2 or FGFR3 pathogenic variants or gene fusions. The study compared erdafitinib with chemotherapy (cited Loriot et al. as reference 56 and level of evidence A1).

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of bladder cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Bladder Cancer Treatment are:

- Juskaran S. Chadha, DO (Moffitt Cancer Center)
- Jad Chahoud, MD, MPH (Moffitt Cancer Center)
- Timothy Gilligan, MD (Cleveland Clinic Taussig Cancer Institute)
- Joseph J. Park, MD (Duke University Medical Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Bladder Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/bladder/hp/bladder-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389399]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).